# Depression (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer-related depression and suicide risk in both the adult and the pediatric population. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Depression is a comorbid, disabling syndrome that affects up to approximately 25% of cancer patients.[1-3] This prevalence significantly exceeds the prevalence in the general population.[4] However, most patients do not receive potentially effective treatments, and only 5% see a mental health professional.[2]

In contrast to depression in the general population, depression in people with cancer is believed to affect men and women equally.[5] Individuals and families who face a diagnosis of cancer experience varying levels of stress and emotional upset. Depression in patients with cancer not only affects the patients themselves, but also has a major negative impact on their families.

Definitions: Depression is suspected when a number of specific symptoms such as low affect, sleep disturbance, and distorted thought patterns are observed. These are specified in the categorization of psychiatric/behavioral disorders in the Diagnostic and Statistical Manual of Mental Disorders, 5th edition.[6]

Normally, a patient’s initial emotional response to a diagnosis of cancer is brief, extending over several days to weeks, and may include feelings of disbelief, denial, or despair. This normal response is part of a spectrum of depressive symptoms that range from normal sadness to adjustment disorder with depressed mood to major depression.[6] Other syndromes described include the following:

- Dysthymia: a chronic mood disorder in which a depressed mood is present on more days than not for at least 2 years.
- Subsyndromal depression (also called minor depression or subclinical depression): an acute mood disorder that is less severe (some, but not all, diagnostic symptoms present) than major depression.

Possible Causes of Depressive Symptoms in People With Cancer
- Experience of loss or anticipated loss.
- Uncontrolled pain.[7][Level of evidence: II]
- Metabolic abnormalities:
  - Hypercalcemia.
  - Sodium/potassium imbalance.
  - Anemia.
  - Vitamin B12 or folate deficiency.
  - Fever.
- Primary or metastatic central nervous system tumors.
- Disruption of sleep due to medical treatments.
- Endocrine abnormalities:
  - Hyperthyroidism or hypothyroidism.
  - Adrenal insufficiency.
- Medications:[8];[9][Level of evidence: II];[10]
  - Steroids.
  - Endogenous and exogenous cytokines, i.e., interferon-alfa and aldesleukin (interleukin-2 [IL-2]).[11]
  - Methyldopa.
  - Reserpine.
  - Barbiturates.
  - Propranolol.
  - Some antibiotics (e.g., amphotericin B).
  - Some chemotherapeutic agents (e.g., procarbazine, asparaginase).
  - Hormone therapy (e.g., androgen deprivation therapy).[12][Level of evidence: III]

A survey in England of women with breast cancer showed that among several factors, depression was the strongest predictor of emotional and behavioral problems in their children.[13] Fear of death, disruption of life plans, changes in body image and self-esteem, changes in social role and lifestyle, and financial and legal concerns are significant issues in the life of any person with cancer, yet not everyone who is diagnosed with cancer experiences serious depression or anxiety. However, many patients with cancer can experience moderately severe depression and anxiety. For example, in a study of 256 women who underwent chemotherapy treatment for early breast cancer, 26% and 41% of study participants reported moderately severe depression and anxiety, respectively. This treatment phase warrants close monitoring of patients’ psychological well-being.[14]

The use of hormone therapy or second-generation antiandrogen therapy is also associated with increased risk of depression. In a retrospective study of 210,804 patients with prostate cancer identified from the Surveillance, Epidemiology, and End Results–Medicare (SEER-Medicare) and Texas Cancer Registry–Medicare linked databases, 3% of patients received second-generation antiandrogen therapy.[12][Level of evidence: III] Using a multivariable Cox proportional hazards model, patients who received second-generation antiandrogen therapy had a greater increased risk of depression, compared with a no-hormone-therapy group (hazard ratio [HR], 2.15; 95% confidence interval [CI], 1.79–2.59; P < .001) and with a traditional-hormone-therapy group (HR, 2.26; 95% CI, 1.88–2.73; P < .001).[12][Level of evidence: III] While this secondary analysis was a limitation of this study, the large sample size merits consideration for monitoring for depression in patients undergoing hormone therapy, particularly second-generation antiandrogen therapy.

In a study of 149 women with nonmetastatic breast cancer, 40% reported at least mild depression at the end of chemotherapy.[15] Up to 5.6 years postchemotherapy, 23% had received a new psychiatric diagnosis, 62% were prescribed a psychotropic medication, and 21% engaged in mental health specialty care.

Just as patients require ongoing evaluation for depression and anxiety throughout their course of treatment, so do family caregivers. In a study of family caregivers of patients in the palliative phase of illness, both male and female caregivers experienced significantly more anxiety than did a sample of noncaregivers, while there was an increased incidence of Hospital Anxiety and Depression Scale–defined depression among women.[16]

Some people may have more difficulty adjusting to the diagnosis of cancer than others do and will vary in their responses to the diagnosis. Sadness and grief are normal reactions to the crises faced during cancer. All people will experience these reactions periodically. Because sadness is common, it is important to distinguish between normal degrees of sadness and depressive disorders. An end-of-life care consensus panel review article describes details regarding this important distinction and illustrates the major points using case vignettes.[17] A critical part of cancer care is the recognition of the levels of depression present and determination of the appropriate level of intervention, ranging from brief counseling or support groups to medication and/or psychotherapy. For example, relaxation and counseling interventions have been shown to reduce psychological symptoms in women with a new diagnosis of gynecological cancer.[18]

Major depression, which is more common in cancer patients than in the general population,[3] has recognizable symptoms whose diagnosis and treatment are essential because they have an impact on quality of life.[19] Major depression may also impact survival. In a large study of 20,582 patients treated for breast, colorectal, gynecological, and prostate cancers across Scotland, United Kingdom, across all cancer diagnoses, having major depression was associated with worse survival (pooled HR, 1.41; 95% CI, 1.29–1.54; P < .001).[20][Level of evidence: II] Similarly, in a population-based study of 13,244 individuals with diffuse large B-cell lymphoma identified through the SEER-Medicare database,[21][Level of evidence: III] compared with patients with no mental health disorders, those with depression had the highest 5-year mortality rate (HR, 1.37; 95% CI, 1.28–1.47), followed by those with co-occurring depression and anxiety (HR, 1.23; 95% CI, 1.08–1.41) and those with anxiety alone (HR, 1.17; 95% CI, 1.06–1.29).

Further, disparities in cancer care have been identified among individuals who have preexisting major depression and/or other severe mental illnesses. A large systematic review and meta-analysis (N = 299,193) [22][Level of evidence: III] found that individuals with breast cancer with preexisting major depression, schizophrenia, and/or bipolar disorder received delayed and discordant care, compared with individuals with cancer without these disorders. Given the high prevalence of depression among patients with cancer, this health care disparity warrants attention.

Depression is also an underdiagnosed disorder in the general population. Symptoms evident at the time of a cancer diagnosis may represent a preexisting condition and warrant separate evaluation and treatment.

Depression and anxiety disorders are common among patients receiving palliative care and contribute to a greatly diminished quality of life in these patients.[23] In the Canadian National Palliative Care Survey, patients receiving palliative care for cancer (N = 381) were evaluated for depressive and anxiety disorders and for the impact of these disorders on quality of life. The primary assessment tool was a modified version of the Primary Care Evaluation of Mental Disorders. A significant number of participants (24.4%; 95% CI, 20.2%–29.0%) were found to fulfill diagnostic criteria for at least one depressive or anxiety disorder (20.7% prevalence for depressive disorder and 13.1% for anxiety disorder).

Participants diagnosed with a depressive or anxiety disorder had the following characteristics:

- Were significantly younger than the other participants (P = .002).
- Had lower performance status (P = .017).
- Had smaller social networks (P = .008).
- Participated less in organized religious services (P = .007).

They also reported more severe distress about physical symptoms, social concerns, and existential issues, suggesting significant negative impact on other aspects of their quality of life.[23]

The importance of psychological issues was underscored by another study conducted in terminally ill cancer patients (n = 211) with life expectancies of less than 6 months.[24] Investigators evaluated patient “sense of burden to others” and its correlation with physical, psychological, and existential issues, using specific validated psychometrics (e.g., visual analog scale). The variables most highly correlated with sense of burden to others included:

- Depression (r = 0.460, P < .0001).
- Hopelessness (r = 0.420, P < .0001).
- Outlook (r = 0.362, P < .0001).

In multiple regression analysis, four variables predicted perception of burden to others:

- Depression.
- Hopelessness.
- Level of fatigue.
- Current quality of life.

No association between sense of burden to others and actual degree of physical dependency was found, implying that this perception is mainly mediated through psychological distress and existential issues. A subanalysis of patient groups from different settings suggested that these findings were consistent across the inpatient and outpatient settings, with some minor variations.[24]

The emotional response to a diagnosis of cancer (or cancer relapse) may begin as a dysphoric period marked by increasing turmoil. The individual will experience sleep and appetite disturbance, anxiety, ruminative thoughts, and fears about the future. Epidemiological studies, however, suggest that at least one-half of all people diagnosed with cancer will successfully adapt.

Strategies to promote psychological adjustment to a diagnosis of cancer and other chronic diseases include the following:[25]

- Remaining as active and engaged in life as possible.
- Expressing emotions in a way that helps to achieve insight.
- Self-management (including healthy diet and exercise).
- Focusing on potential positive outcomes of illness.

Some studies suggest an association between maladaptive coping styles and higher levels of depression, anxiety, and fatigue symptoms.[26,27] Examples of maladaptive coping behaviors include the following:

- Avoidant or negative coping.
- Negative self-coping statements.
- Preoccupation with physical symptoms.
- Catastrophizing.

One study conducted in a group of 86 mostly late-stage cancer patients suggested that maladaptive coping styles and higher levels of depressive symptoms are potential predictors of the timing of disease progression.[27] Another study examining coping strategies in women with breast cancer (n = 138) concluded that patients with better coping skills such as positive self-statements have lower levels of depressive and anxiety symptoms.[26] The same study found racial differences in the use of coping strategies, with African American women reporting and benefiting more from the use of religious coping strategies such as prayer and hopefulness than did White women.[26]

Preliminary data suggest a beneficial impact of spirituality on associated depression, as measured by the Functional Assessment of Chronic Illness Therapy—Spiritual Well-Being questionnaire and the Hamilton Depression Rating Scale.[28]

The following indicators may suggest a need for early intervention:

- A history of depression.
- A weak social support system (not married, few friends, a solitary work environment).
- Evidence of persistent irrational beliefs or negativistic thinking regarding the diagnosis.
- A more serious prognosis.
- Greater dysfunction related to cancer.

As shown by a study of adult cancer patients (n = 48) and their adult relatives (n = 99), family functioning is an important factor that impacts patient and family distress. Families that were able to act openly, express feelings directly, and solve problems effectively had lower levels of depression, and direct communication of information within the family was associated with lower levels of anxiety.[29] Depressive symptoms in spouses of patients with cancer can also have a negative impact on their marital communication. A preliminary study investigated 19 potential predictors of depression in spouses (n = 206) of women with nonmetastatic breast cancer.[30] Spouses were more likely to experience depressive symptoms if they:

- Were older.
- Were less well-educated.
- Were more-recently married.
- Reported heightened fears about their spouse’s well-being.
- Worried about their job performance.
- Were more uncertain about their future.
- Were in marriages that were less well-adjusted.

Risk factors may be different, especially pain and other physical symptoms.[31] When the clinician begins to suspect that a patient is depressed, he or she will assess the patient for symptoms. Mild or subclinical levels of depression that include some, but not all, of the diagnostic criteria for a major depressive episode can cause considerable distress and may warrant interventions such as supportive individual or group counseling, either by a mental health professional or through participation in a self-help support group.[32]

Evidence-based recommendations have described various approaches to the problems of cancer-related fatigue, anorexia, depression, and dyspnea.[33] Even in the absence of any symptoms, many patients express interest in supportive counseling; clinicians can accommodate these patients with referrals to qualified mental health professionals. However, when symptoms are more intense, longer lasting, or recurrent after apparent resolution, treatment to alleviate symptoms is essential.[19,34,35] Anxiety and depression in early treatment are good predictors of these same problems at 6 months.[36] In a study of older women with breast cancer, a recent diagnosis of depression was associated with both a greater likelihood of not receiving definitive cancer treatment and poorer survival.[37]

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Krebber AM, Buffart LM, Kleijn G, et al.: Prevalence of depression in cancer patients: a meta-analysis of diagnostic interviews and self-report instruments. Psychooncology 23 (2): 121-30, 2014.24105788
Walker J, Hansen CH, Martin P, et al.: Prevalence, associations, and adequacy of treatment of major depression in patients with cancer: a cross-sectional analysis of routinely collected clinical data. Lancet Psychiatry 1 (5): 343-50, 2014.26360998
Mitchell AJ, Chan M, Bhatti H, et al.: Prevalence of depression, anxiety, and adjustment disorder in oncological, haematological, and palliative-care settings: a meta-analysis of 94 interview-based studies. Lancet Oncol 12 (2): 160-74, 2011.21251875
Pitman A, Suleman S, Hyde N, et al.: Depression and anxiety in patients with cancer. BMJ 361: k1415, 2018.29695476
Miller S, Lo C, Gagliese L, et al.: Patterns of depression in cancer patients: an indirect test of gender-specific vulnerabilities to depression. Soc Psychiatry Psychiatr Epidemiol 46 (8): 767-74, 2011.20574846
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Ciaramella A, Poli P: Assessment of depression among cancer patients: the role of pain, cancer type and treatment. Psychooncology 10 (2): 156-65, 2001 Mar-Apr.11268142 21169264
Drugs that cause psychiatric symptoms. Med Lett Drugs Ther 31 (808): 113-8, 1989.2689852 90097701
Capuron L, Ravaud A, Neveu PJ, et al.: Association between decreased serum tryptophan concentrations and depressive symptoms in cancer patients undergoing cytokine therapy. Mol Psychiatry 7 (5): 468-73, 2002.12082564 22077655
Rogers D, Pies R: General medical with depression drugs associated. Psychiatry (Edgmont) 5 (12): 28-41, 2008.19724774
Menzies H, Chochinov HM, Breitbart W: Cytokines, cancer and depression: connecting the dots. J Support Oncol 3 (1): 55-7, 2005 Jan-Feb.15724946
Nowakowska MK, Lei X, Wehner MR, et al.: Association of Second-generation Antiandrogens With Depression Among Patients With Prostate Cancer. JAMA Netw Open 4 (12): e2140803, 2021.34940861
Watson M, St James-Roberts I, Ashley S, et al.: Factors associated with emotional and behavioural problems among school age children of breast cancer patients. Br J Cancer 94 (1): 43-50, 2006.16317432
Nakamura ZM, Deal AM, Nyrop KA, et al.: Serial Assessment of Depression and Anxiety by Patients and Providers in Women Receiving Chemotherapy for Early Breast Cancer. Oncologist 26 (2): 147-156, 2021.32946156
Nakamura ZM, Damone EM, Herrick HP, et al.: Anticipating mental health needs after chemotherapy in early-stage breast cancer using patient-reported symptom screening. Support Care Cancer 30 (5): 3933-3941, 2022.35044483
Grov EK, Dahl AA, Moum T, et al.: Anxiety, depression, and quality of life in caregivers of patients with cancer in late palliative phase. Ann Oncol 16 (7): 1185-91, 2005.15849218
Block SD: Assessing and managing depression in the terminally ill patient. ACP-ASIM End-of-Life Care Consensus Panel. American College of Physicians - American Society of Internal Medicine. Ann Intern Med 132 (3): 209-18, 2000.10651602 20104803
Petersen RW, Quinlivan JA: Preventing anxiety and depression in gynaecological cancer: a randomised controlled trial. BJOG 109 (4): 386-94, 2002.12013159 22004401
Lynch ME: The assessment and prevalence of affective disorders in advanced cancer. J Palliat Care 11 (1): 10-8, 1995 Spring.7751981 95271385
Walker J, Mulick A, Magill N, et al.: Major Depression and Survival in People With Cancer. Psychosom Med 83 (5): 410-416, 2021.33938501
Kuczmarski TM, Tramontano AC, Mozessohn L, et al.: Mental health disorders and survival among older patients with diffuse large B-cell lymphoma in the USA: a population-based study. Lancet Haematol 10 (7): e530-e538, 2023.37271158
Kisely S, Alotiby MKN, Protani MM, et al.: Breast cancer treatment disparities in patients with severe mental illness: A systematic review and meta-analysis. Psychooncology 32 (5): 651-662, 2023.36892099
Wilson KG, Chochinov HM, Skirko MG, et al.: Depression and anxiety disorders in palliative cancer care. J Pain Symptom Manage 33 (2): 118-29, 2007.17280918
Chochinov HM, Kristjanson LJ, Hack TF, et al.: Burden to others and the terminally ill. J Pain Symptom Manage 34 (5): 463-71, 2007.17616329
de Ridder D, Geenen R, Kuijer R, et al.: Psychological adjustment to chronic disease. Lancet 372 (9634): 246-55, 2008.18640461
Reddick BK, Nanda JP, Campbell L, et al.: Examining the influence of coping with pain on depression, anxiety, and fatigue among women with breast cancer. J Psychosoc Oncol 23 (2-3): 137-57, 2005.16492656
Beresford TP, Alfers J, Mangum L, et al.: Cancer survival probability as a function of ego defense (adaptive) mechanisms versus depressive symptoms. Psychosomatics 47 (3): 247-53, 2006 May-Jun.16684942
Nelson CJ, Rosenfeld B, Breitbart W, et al.: Spirituality, religion, and depression in the terminally ill. Psychosomatics 43 (3): 213-20, 2002 May-Jun.12075036 22070552
Edwards B, Clarke V: The psychological impact of a cancer diagnosis on families: the influence of family functioning and patients' illness characteristics on depression and anxiety. Psychooncology 13 (8): 562-76, 2004.15295777
Lewis FM, Fletcher KA, Cochrane BB, et al.: Predictors of depressed mood in spouses of women with breast cancer. J Clin Oncol 26 (8): 1289-95, 2008.18323552
Patrick DL, Ferketich SL, Frame PS, et al.: National Institutes of Health State-of-the-Science Conference Statement: Symptom Management in Cancer: Pain, Depression, and Fatigue, July 15-17, 2002. J Natl Cancer Inst 95 (15): 1110-7, 2003.12902440 22784336
Meyer TJ, Mark MM: Effects of psychosocial interventions with adult cancer patients: a meta-analysis of randomized experiments. Health Psychol 14 (2): 101-8, 1995.7789344 95309215
Dy SM, Lorenz KA, Naeim A, et al.: Evidence-based recommendations for cancer fatigue, anorexia, depression, and dyspnea. J Clin Oncol 26 (23): 3886-95, 2008.18688057
Massie MJ, Holland JC: Overview of normal reactions and prevalence of psychiatric disorders. In: Holland JC, Rowland JH, eds.: Handbook of Psychooncology: Psychological Care of the Patient With Cancer. Oxford University Press, 1989, pp 273-82.
Massie MJ, Shakin EJ: Management of depression and anxiety in cancer patients. In: Breitbart W, Holland JC, eds.: Psychiatric Aspects of Symptom Management in Cancer Patients. American Psychiatric Press, 1993, pp 470-91.
Nordin K, Glimelius B: Predicting delayed anxiety and depression in patients with gastrointestinal cancer. Br J Cancer 79 (3-4): 525-9, 1999.10027324 99149570
Goodwin JS, Zhang DD, Ostir GV: Effect of depression on diagnosis, treatment, and survival of older women with breast cancer. J Am Geriatr Soc 52 (1): 106-11, 2004.14687323

## Assessment and Diagnosis

### Symptoms and Risk Factors

There are two major classifications of symptoms for major depression: neurovegetative and emotional-cognitive. In cancer patients whose neurovegetative symptoms may be affected by the disease process or treatment, assessing the emotional-cognitive symptoms of their depression is likely to be more diagnostic and prevent false-positive results. Symptoms include the following:

- A depressed mood for most of the day and on most days.
- Diminished pleasure or interest in most activities.
- Significant change in appetite and sleep patterns.
- Psychomotor agitation or slowing.
- Fatigue.[1]
- Feelings of worthlessness or excessive, inappropriate guilt.
- Poor concentration.
- Recurrent thoughts of death or suicide.

Cognitive symptoms may express themselves as repeated and ruminative thoughts such as “I brought this on myself,” “God is punishing me,” or “I’m letting my family down,” and as fatalistic expectations concerning prognosis, despite realistic evidence to the contrary. Such thinking may predominate or may alternate with more realistic thinking yet remain very stressful. Some individuals will share negativistic thoughts freely, and family members may be aware of them. Other patients will not volunteer such thinking but will respond to brief inquiries such as the following (other examples are listed in Table 2):

- “Many people find themselves dwelling on thoughts about their cancer. What kinds of thoughts do you have?”
- “Do you find yourself ever thinking, ‘I brought this on myself. God is punishing me’? How often? Only a few times a week, or all the time? Do you believe these thoughts are true?”
- “In spite of these thoughts, are you still able to go on with your life and find pleasure in things? Or, are you so preoccupied that you can't sleep, or feel hopeless?”

It is possible for a physician or nurse to ask these types of questions without becoming engaged in providing counseling themselves. Merely asking these questions will express concern and increase the likelihood that the patient will be receptive to suggestions for further counseling.

These questions can be followed by a statement such as, “Many people with cancer sometimes have these feelings. You are not alone. But talking to someone else about them can greatly help. I'd like to suggest that you consider doing that. Would you be willing to talk to someone who has a lot of experience helping people cope with the stress of having cancer?”

It is preferable at this time both to encourage patients to seek out someone already known to them and to inform them about other resources in the community. Particularly for patients who have completed cancer treatment and who have manageable physical symptoms, higher perceived availability of social support has been associated with fewer depressive symptoms.[2] In some instances, referral to a cleric or therapist may also be appropriate. Most therapists can address general issues of grief or fears about death; some will specialize in clinical health psychology, medical social work, or even working primarily with cancer patients. For the hesitant patient, suggesting multiple resources will increase the likelihood that some assistance will be sought. For other patients, a formal direct referral may be appropriate.

Evaluation of depression in people with cancer includes careful assessment of the following:

- Symptoms.
- Treatment effects.
- Laboratory data results.
- Physical status.
- Mental status.

Although the etiology of depression in patients with cancer is largely unknown, many risk factors for depression have been identified. The major risk factors for cancer-related depression include psychological and social factors. Preexisting mental health issues and impaired social support carry the highest risk.[3] Certain comorbidities, such as fatigue, pain, and lower physical functioning, can also increase depression risk. Cancer-related risk factors such as cancer type, stage, and treatment may play a role, but they carry a lower risk than psychological and social factors.[3] However, certain cancers—such as head and neck cancers and pancreatic cancer—carry a high risk of depression. Cancer-related risk factors can be divided into four broad categories, as shown in Table 1.

Table 1. Risk Factors for Cancer-Related Depression

Type of Risk Factor | Specific Risk Factors
Psychological | History of depression or other mental illness^a^, neuroticism^a^, dysfunctional coping behaviors^b^
Social, sociodemographic, and socioeconomic | Impaired social support^a^, single/separated/widowed^a^, female gender^a^, lower socioeconomic status^b^, lower educational level^b^
Comorbidities | Pain^a^, fatigue^a^, overall symptom burden^a^, lower physical functioning^b^
Cancer and cancer treatment | Specific cancer types (pancreatic, head and neck)^a^, advanced cancer^b^

^a^High risk.

^b^Moderate risk.

For patients with head and neck cancer treated with curative intent, the following eight pretreatment variables can be used to predict which patients are likely to become depressed up to 3 years after treatment:[4,5]

- Tumor stage.
- Sex.
- Depressive symptoms.
- Openness to discussing his/her cancer with family members.
- Perceived available support.
- Received emotional support.
- Tumor-related symptoms.
- Size of the informal social network.

### Screening and Assessment for Depression

Because of the common underrecognition and undertreatment of depression in people with cancer,[6] screening tools can be used to prompt further assessment.[7] Among the physically ill, in general, instruments used to measure depression have not been shown to be more clinically useful than an interview and a thorough examination of mental status. Simply asking the patient whether he or she is depressed may improve the identification of depression.

The following screening tools are commonly used:

- A single-item interview. In people with advanced cancer, a single-item interview question has been found to have acceptable psychometric properties and can be useful. One example is to ask “Are you depressed?”[8] Another example is to say, “Please grade your mood during the past week by assigning it a score from 0 to 100, with a score of 100 representing your usual relaxed mood.” A score of 60 is considered a passing grade.[9]
- The Hospital Anxiety and Depression Scale (HADS). The HADS may be useful in the assessment of depression and anxiety in patients who have comorbid neurovegetative symptoms due to their disease or treatment, helping to avoid false-positive results on the scale caused by these symptoms.[10-12]
- The nine-item Patient Health Questionnaire (PHQ-9).[13]
- The Psychological Distress Inventory.[14]
- The Edinburgh Depression Scale.[15]
- The Brief Symptom Inventory.[16]
- The Zung Self-Rating Depression Scale.[17]
- The Distress Thermometer.[18]

One study of women with newly diagnosed breast cancer (n = 236) successfully used brief screening instruments such as the Distress Thermometer and the PHQ-9 to identify women requiring further assessment to detect clinically significant levels of distress and psychiatric symptoms.[19]

In a study of 321 women with newly diagnosed stage I to stage III breast cancer, the ability of the single-item Distress Thermometer to specifically predict depression, as measured by a self-report questionnaire of the nine Diagnostic and Statistical Manual of Mental Disorders, 4th edition (DSM-IV) symptoms for major depressive disorder, was investigated. Sensitivity and specificity characteristics were evaluated, and the optimal cutoff score of 7 was identified, resulting in a sensitivity of 0.81 and a specificity of 0.85 for detecting depression. Therefore, individuals scoring 7 or above will undergo a more thorough psychosocial evaluation.[20]

The Impact Thermometer, a modification of and accompaniment to the Distress Thermometer, has improved specificity for the detection of adjustment disorders and/or major depression, as compared with the Distress Thermometer. The revised tool has a screening performance comparable to that of the HADS and is brief, potentially making it an effective tool for routine screening in oncology settings.[21] The Mood Evaluation Questionnaire, a cognitive-based screening tool for depression, has moderate correlation with the structured clinical interview for the DSM, 3rd revised edition (DSM-III-R) and good acceptability in the palliative care population. With further validation, it may become a useful alternative in this population because it can be used by clinicians who are not trained in psychiatry.[22]

It is important that screening instruments be validated in cancer populations and used in combination with structured diagnostic interviews.[23] A pilot study of 25 patients used a simple, easily reproduced visual analog scale suggesting the benefits of a single-item approach to screening for depression. This scale consists of a 10-cm line with a sad face at one end and a happy face at the other end, on which patients make a mark to indicate their mood. Although the results do suggest that a visual analog scale may be useful as a screening tool for depression, the small patient numbers and lack of clinical interviews limit conclusions. Furthermore, although very high correlations with the HADS were reported (r = 0.87), no indication of cutoffs was given. Finally, it is emphasized that such a tool is intended to suggest the need for further professional assessment. However, if validated further, this simple approach could greatly enhance assessment and management of depression in cognitively intact advanced-cancer patients.[24,25]

In a study of 2,141 German cancer patients, the HADS and the PHQ-9 had similar sensitivity (89% and 83%, respectively) and specificity (43% and 61%, respectively) for detecting DSM-IV major depressive disorder at suggested cutoffs based on receiver operating characteristic curves.[26]

Other brief assessment tools for depression can be used. To help patients distinguish normal anxiety reactions from depression, assessment includes discussion about common symptoms experienced by cancer patients. Depression is reassessed over time.[27] Because of the increased risk of adjustment disorders and major depression in cancer patients, routine screening with increased vigilance at times of increased stress (e.g., diagnosis, recurrences, progression) is recommended.[28] General risk factors for depression are noted in the list above. Other risk factors may pertain to specific populations, for example, patients with head and neck cancer [4] and women at high risk of developing breast cancer.[29]

#### Clinical interview

Table 2. Suggested Questions for the Assessment of Depressive Symptoms in Adults With Cancer^a^

Question | Symptom
Depressive symptoms
How well are you coping with your cancer? Well? Poorly? | Well-being
How are your spirits since diagnosis? During treatment? Down? Blue? | Mood
Do you cry sometimes? How often? Only alone? | Mood
Are there things you still enjoy doing, or have you lost pleasure in things you used to do before you had cancer? | Anhedonia
How does the future look to you? Bright? Black? | Hopelessness
Do you feel you can influence your care, or is your care totally under others' control? | Helplessness
Do you worry about being a burden to family/friends during cancer treatment? | Guilt
Do you feel others might be better off without you? | Worthlessness
Physical symptoms (evaluate in the context of cancer-related symptoms)
Do you have pain that isn't controlled? | Pain
How much time do you spend in bed? | Fatigue
Do you feel weak? Fatigue easily? Rested after sleep? Any relationship between how you feel and a change in treatment or how you otherwise feel physically? | Fatigue
How is your sleeping? Trouble going to sleep? Awake early? Often? | Insomnia
How is your appetite? Food tastes good? Weight loss or gain? | Appetite
How is your interest in sex? Extent of sexual activity? | Libido
Do you think or move more slowly than usual? | Psychomotor slowing

^a^Adapted from Roth et al.[30]

Organic Mood Syndromes or Mood Syndromes Related to Another Medical Condition (MSRAMC), as they are referred to in the DSM, 5th edition (DSM-5),[31] often mimic the mood syndromes in their presentation. The assumption is made (perhaps based on their time course or laboratory data) that an organic or medical factor has a role in the etiology of the syndrome. The DSM-5 suggests that prominent cognitive abnormalities may be accompanying factors and therefore are useful in making the diagnosis. Consideration should be given to obtaining laboratory data to assist in detection of electrolyte or endocrine imbalances or the presence of nutritional deficiencies. Clinical experience suggests that pharmacotherapy is more advantageous than psychotherapy alone in the treatment of depression that is caused by medical factors, particularly if the dosages of the causative agent(s) (i.e., steroids, antibiotics, or other medications) cannot be decreased or discontinued.[32]

### Diagnosis

To make a diagnosis of depression, the clinician confirms that these symptoms have lasted at least 2 weeks and are present on most days. The diagnosis of depression in people with cancer can be difficult because of the problems inherent in distinguishing biological or physical symptoms of depression from symptoms of illness or toxic side effects of treatment. This is particularly true of individuals who are receiving active treatment or those with advanced disease.

The following cognitive symptoms are probably the most useful in diagnosing depression in people with cancer:

- Guilt.
- Worthlessness.
- Hopelessness.
- Helplessness.
- Thoughts of suicide.
- Loss of pleasure in activities.

One German study comparing cancer patients who had a current affective disorder with those who had a single depressive symptom found loss of interest, followed by depressed mood, to yield the highest power of discrimination between the two groups on multivariate analysis.[33]

The evaluation of depression in people with cancer also includes:

- Careful assessment of the person’s perception of the illness.
- Medical history.
- Personal or family history of depression or thoughts of suicide.
- Current mental status, and physical status, as well as treatment and disease effects.
- Concurrent life stressors.
- Availability of social supports.

More than 90% of patients indicate that they prefer to discuss emotional issues with their physician, but more than one-quarter of patients feel that the physician must initiate any discussion of that topic.[34]

Suicidal ideation is not uncommon among patients with cancer and, when it occurs, is frightening for the individual, the health professional, and the family. In one study of 354 health care providers working with oncology patients in Germany, 83.3% reported that they had at least one patient with suicidal ideation in the past year, and 59% reported having one to three suicidal patients annually. This experience was distressing for 88.1% of providers. In addition, over 20% of providers reported feeling overwhelmed when confronted with a suicidal patient.[35][Level of evidence: II]

Suicidal statements may range from an offhand comment resulting from frustration or disgust with a treatment course—“If I have to have one more bone marrow aspiration this year, I’ll jump out the window”—to a reflection of significant despair and an emergent situation—“I can no longer bear what this disease is doing to all of us, and I am going to kill myself.” Exploring the seriousness of the thoughts is imperative. If the suicidal thoughts are believed to be serious, it is imperative that a referral to a psychiatrist or psychologist is made immediately and attention is given to the patient’s safety.[34] For more information, see the Suicide Risk in Cancer Patients section.

The most common form of depressive symptomatology in people with cancer is an adjustment disorder with depressed mood, sometimes referred to as reactive depression. This disorder is manifested when a person has a dysphoric mood that is accompanied by the inability to perform usual activities.[36][Level of evidence: II] The symptoms appear to be prolonged and in excess of a normal and expected reaction but do not meet the criteria for a major depressive episode. When these symptoms significantly interfere with a person's daily functioning, such as attending to work or school activities, shopping, or caring for a household, they are treated in the same way that major depression is treated (i.e., with crisis intervention, supportive psychotherapy, and medication, especially with drugs that quickly relieve distressing symptoms). Basing the diagnosis on these symptoms can be problematic when the individual has advanced disease and the illness itself is undermining functioning.

It is also important to distinguish between fatigue and depression, which are often interrelated and can be part of a symptom cluster. The different mechanisms that give rise to these conditions can be treated separately.[1] In more advanced illness, focusing on despair, guilty thoughts, and a total lack of enjoyment of life is helpful in diagnosing depression. For more information, see Symptom Clusters in Cancer and Adjustment to Cancer: Anxiety and Distress.

### References

Jacobsen PB, Donovan KA, Weitzner MA: Distinguishing fatigue and depression in patients with cancer. Semin Clin Neuropsychiatry 8 (4): 229-40, 2003.14613050
De Leeuw JR, De Graeff A, Ros WJ, et al.: Negative and positive influences of social support on depression in patients with head and neck cancer: a prospective study. Psychooncology 9 (1): 20-8, 2000 Jan-Feb.10668056 20134757
Riedl D, Schüßler G: Factors associated with and risk factors for depression in cancer patients - A systematic literature review. Transl Oncol 16: 101328, 2022.34990907
de Leeuw JR, de Graeff A, Ros WJ, et al.: Prediction of depression 6 months to 3 years after treatment of head and neck cancer. Head Neck 23 (10): 892-8, 2001.11592237 21475693
Paice JA: Managing psychological conditions in palliative care. Am J Nurs 102 (11): 36-42; quiz 43, 2002.12436073 22322611
Nakamura ZM, Deal AM, Nyrop KA, et al.: Serial Assessment of Depression and Anxiety by Patients and Providers in Women Receiving Chemotherapy for Early Breast Cancer. Oncologist 26 (2): 147-156, 2021.32946156
Passik SD, Dugan W, McDonald MV, et al.: Oncologists' recognition of depression in their patients with cancer. J Clin Oncol 16 (4): 1594-600, 1998.9552071 98211798
Chochinov HM, Wilson KG, Enns M, et al.: "Are you depressed?" Screening for depression in the terminally ill. Am J Psychiatry 154 (5): 674-6, 1997.9137124 97282990
Akizuki N, Akechi T, Nakanishi T, et al.: Development of a brief screening interview for adjustment disorders and major depression in patients with cancer. Cancer 97 (10): 2605-13, 2003.12733160 22617776
Love AW, Kissane DW, Bloch S, et al.: Diagnostic efficiency of the Hospital Anxiety and Depression Scale in women with early stage breast cancer. Aust N Z J Psychiatry 36 (2): 246-50, 2002.11982548 21978741
Lloyd-Williams M, Friedman T, Rudd N: An analysis of the validity of the Hospital Anxiety and Depression scale as a screening tool in patients with advanced metastatic cancer. J Pain Symptom Manage 22 (6): 990-6, 2001.11738161 21602368
Annunziata MA, Muzzatti B, Bidoli E, et al.: Hospital Anxiety and Depression Scale (HADS) accuracy in cancer patients. Support Care Cancer 28 (8): 3921-3926, 2020.31858249
Spitzer RL, Kroenke K, Williams JB: Validation and utility of a self-report version of PRIME-MD: the PHQ primary care study. Primary Care Evaluation of Mental Disorders. Patient Health Questionnaire. JAMA 282 (18): 1737-44, 1999.10568646
Morasso G, Costantini M, Baracco G, et al.: Assessing psychological distress in cancer patients: validation of a self-administered questionnaire. Oncology 53 (4): 295-302, 1996 Jul-Aug.8692533 96295600
Lloyd-Williams M, Riddleston H: The stability of depression scores in patients who are receiving palliative care. J Pain Symptom Manage 24 (6): 593-7, 2002.12551809 22439988
Calderon C, Ferrando PJ, Lorenzo-Seva U, et al.: Factor structure and measurement invariance of the Brief Symptom Inventory (BSI-18) in cancer patients. Int J Clin Health Psychol 20 (1): 71-80, 2020 Jan-Apr.32021621
Dugan W, McDonald MV, Passik SD, et al.: Use of the Zung Self-Rating Depression Scale in cancer patients: feasibility as a screening tool. Psychooncology 7 (6): 483-93, 1998 Nov-Dec.9885089 99100827
Roth AJ, Kornblith AB, Batel-Copel L, et al.: Rapid screening for psychologic distress in men with prostate carcinoma: a pilot study. Cancer 82 (10): 1904-8, 1998.9587123 98246550
Hegel MT, Moore CP, Collins ED, et al.: Distress, psychiatric syndromes, and impairment of function in women with newly diagnosed breast cancer. Cancer 107 (12): 2924-31, 2006.17103381
Hegel MT, Collins ED, Kearing S, et al.: Sensitivity and specificity of the Distress Thermometer for depression in newly diagnosed breast cancer patients. Psychooncology 17 (6): 556-60, 2008.17957755
Akizuki N, Yamawaki S, Akechi T, et al.: Development of an Impact Thermometer for use in combination with the Distress Thermometer as a brief screening tool for adjustment disorders and/or major depression in cancer patients. J Pain Symptom Manage 29 (1): 91-9, 2005.15652442
Meyer HA, Sinnott C, Seed PT: Depressive symptoms in advanced cancer. Part 1. Assessing depression: the Mood Evaluation Questionnaire. Palliat Med 17 (7): 596-603, 2003.14594150
Lynch ME: The assessment and prevalence of affective disorders in advanced cancer. J Palliat Care 11 (1): 10-8, 1995 Spring.7751981 95271385
Lees N, Lloyd-Williams M: Assessing depression in palliative care patients using the visual analogue scale: a pilot study. Eur J Cancer Care (Engl) 8 (4): 220-3, 1999.10889619 20348060
Passik SD, Kirsh KL, Theobald D, et al.: Use of a depression screening tool and a fluoxetine-based algorithm to improve the recognition and treatment of depression in cancer patients. A demonstration project. J Pain Symptom Manage 24 (3): 318-27, 2002.12458113 22345943
Hartung TJ, Friedrich M, Johansen C, et al.: The Hospital Anxiety and Depression Scale (HADS) and the 9-item Patient Health Questionnaire (PHQ-9) as screening instruments for depression in patients with cancer. Cancer 123 (21): 4236-4243, 2017.28654189
Patrick DL, Ferketich SL, Frame PS, et al.: National Institutes of Health State-of-the-Science Conference Statement: Symptom Management in Cancer: Pain, Depression, and Fatigue, July 15-17, 2002. J Natl Cancer Inst 95 (15): 1110-7, 2003.12902440 22784336
Andersen BL, DeRubeis RJ, Berman BS, et al.: Screening, assessment, and care of anxiety and depressive symptoms in adults with cancer: an American Society of Clinical Oncology guideline adaptation. J Clin Oncol 32 (15): 1605-19, 2014.24733793
Wellisch DK, Lindberg NM: A psychological profile of depressed and nondepressed women at high risk for breast cancer. Psychosomatics 42 (4): 330-6, 2001 Jul-Aug.11496022 21387746
Roth AJ, Holland JC: Psychiatric complications in cancer patients. In: Brain MC, Carbone PP, eds.: Current Therapy in Hematology-Oncology. 5th ed. Mosby-Year Book, Inc., 1995, pp 609-18.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Breitbart W, Holland JC: Psychiatric complications of cancer. Current Therapy in Hematology-Oncology 3: 268-74, 1988.
Reuter K, Raugust S, Bengel J, et al.: Depressive symptom patterns and their consequences for diagnosis of affective disorders in cancer patients. Support Care Cancer 12 (12): 864-70, 2004.15480816
Detmar SB, Aaronson NK, Wever LD, et al.: How are you feeling? Who wants to know? Patients' and oncologists' preferences for discussing health-related quality-of-life issues. J Clin Oncol 18 (18): 3295-301, 2000.10986063 20442267
Senf B, Maiwurm P, Fettel J: Exposure to suicidality in professionals working with oncology patients: An online survey. Psychooncology 29 (10): 1620-1629, 2020.32672869
Nordin K, Wasteson E, Hoffman K, et al.: Discrepancies between attainment and importance of life values and anxiety and depression in gastrointestinal cancer patients and their spouses. Psychooncology 10 (6): 479-89, 2001 Nov-Dec.11747060 21612771

## Intervention

The decision to initiate therapy for depression depends on the probability that the patient will recover spontaneously in the next 2 to 4 weeks, the degree of functional impairment, and the severity and duration of the depressive symptoms.[1] It is important to assess the nature of emotional distress and factors contributing to the depression symptomatology (e.g., psychosocial factors, demoralization, and comorbid symptoms such as pain or fatigue). Decisions about interventions depend on the severity of depression and on factors driving depression symptomatology.[2] Studies have shown that treatment of severe major depression is optimized by a combination of pharmacotherapy and psychotherapy.[2] Thus, even if a primary care physician or oncologist undertakes the treatment of depressive symptoms pharmacologically, a referral for psychotherapy or supportive counseling should be considered.

For the following reasons, referral of individuals for a psychiatric consultation should be considered:[3,4]

- The primary care physician or oncologist does not feel competent treating the patient for depression because of specific clinical features in the presentation (i.e., if prominent suicidal tendencies are present).
- The depressive symptoms treated by the primary physician are resistant to pharmacological interventions after 2 to 4 weeks of intervention.
- The depressive symptoms are worsening rather than improving.
- Initiating treatment with antidepressant drugs, titrating drug doses, or continuing treatment is interrupted or made problematic by adverse effects attributable to the medication.
- The depressive symptoms are interfering with the patient’s ability to cooperate with medical treatment.

In addition, among patients who have completed treatment for cancer and have comorbid depression, the use of antidepressants may decrease the risk of cancer recurrence. For example, in a population-based study, men with prostate cancer with documented depression disorder (n = 10,017) were followed for over 20 years. The researchers found that those who took antidepressants had lower rates of prostate cancer recurrence than those who did not take antidepressants.[5] While this evidence is intriguing, prospective, confirmatory trials and investigations are needed to better understand these findings and the underlying mechanisms.

### Pharmacological Intervention

#### Overview

There is a dearth of randomized, placebo-controlled trials assessing the risks and benefits of antidepressants in patients with cancer and depression or depressive symptoms. Furthermore, these studies are limited by methodological challenges and a lack of broad representation of children, adolescents, older adults, and minority groups.[6] However, a systematic review and meta-analysis of the available studies suggest that antidepressants, regardless of their class (e.g., selective serotonin reuptake inhibitors [SSRIs] or tricyclic antidepressants [TCAs]), are more effective than placebo in treating depression in patients with cancer.[7] Evidence also suggests that the efficacy of antidepressant treatment is related to the presence of clinically significant depression symptomatology,[8] suggesting that antidepressants be reserved for patients presenting with clinical depression.

A survey of prescribing patterns in outpatient oncology settings over a 2-year period found that antidepressants were prescribed for about 14% of patients.[9] In a systematic review of newer pharmacotherapies for depression in adults, the response rate for treatment of depression with antidepressants was found to be approximately 54%.[10] The efficacy of the newer pharmacotherapies is similar to that of older antidepressants for general medical patients, including older adults and those with medical or psychiatric comorbidities.[10] The rates of dropout due to adverse effects are approximately 11% for newer antidepressants and 16% for older antidepressants.[10]

Because of the relative paucity of data regarding antidepressant use in oncology settings, there is considerable variability in practice patterns related to prescribing antidepressants for cancer patients. Although studies generally indicate that about 25% of all cancer patients are depressed, one study found that only 16% of cancer patients were receiving antidepressant medication.[11] However, among depressed patients with advanced cancer who had an unplanned hospitalization, patients who were treated with a prescribed antidepressant had shorter hospitalizations than did patients who were not treated.[12]

#### Antidepressant classes

Antidepressants are divided into several classes on the basis of their underlying mechanisms. Most inhibit uptake of neurotransmitters; some also have a direct impact on cell receptors (see Table 3).

Table 3. Antidepressant Medications^a^ and Adjunctive Pharmacological Treatments

SSRIs
Medication | Starting Dose (mg/day) | Maintenance Dose (mg/day) | Comments
Citalopram | 10–20 | 20–40 | Better safety-tolerability profile than other antidepressants.
Citalopram | 10–20 | 20–40 | Potential for QTc prolongation (dose increase limited in patients with cardiac issues).
Escitalopram | 5–10 | 10–20 | Better safety-tolerability profile than other antidepressants.
Fluoxetine | 10–20 | 20–60 | Minimal risk of serotonin discontinuation syndrome due to long half-life.
Fluoxetine | 10–20 | 20–60 | Significant inhibitor of CYP2D6.
Fluvoxamine | 25–50 | 100–300 | Better anxiolytic properties than other SSRIs.
Fluvoxamine | 25–50 | 100–300 | Significant inhibitor of CYP1A2 and CYP3A4.
Paroxetine | 10–20 | 20–60 | High risk of serotonin discontinuation syndrome.
Paroxetine | 10–20 | 20–60 | Modest anticholinergic properties.
Paroxetine | 10–20 | 20–60 | Significant inhibitor of CYP2D6.
Sertraline | 25–50 | 100–200 | Higher risk of GI side effects.
Sertraline | 25–50 | 100–200 | Dose-dependent inhibition of CYP2D6.
Vilazodone | 10 | 20–40 | Risk of GI side effects.
Vilazodone | 10 | 20–40 | Possibly less risk of sexual dysfunction, but evidence inconclusive.
SNRIs^b^
Medication | Starting Dose (mg/day) | Maintenance Dose (mg/day) | Comments
Desvenlafaxine | 50 | 50–100 | Positive impact on hot flashes.
Duloxetine | 30 | 30–60 | First-line treatment in patients with comorbid neuropathic pain (in doses as high as 120 mg).
Duloxetine | 30 | 30–60 | Higher risk of GI side effects and hypertension.
Duloxetine | 30 | 30–60 | Risk of hepatotoxicity.
Levomilnacipran | 20 | 40–120 | More-potent noradrenergic effects, activating effects.
Levomilnacipran | 20 | 40–120 | Useful for comorbid cognitive and pain symptoms.
Levomilnacipran | 20 | 40–120 | Increased risk of cardiovascular side effects, sweating, and urinary hesitancy.
Venlafaxine (IR and XL) | 37.5–75 | 150–225 | First-line treatment in patients with comorbid hot flashes.
Venlafaxine (IR and XL) | 37.5–75 | 150–225 | Higher risk of serotonin discontinuation syndrome.
TCAs
Medication (only most commonly used TCAs included below) | Starting Dose (mg/day) | Maintenance Dose (mg/day) | Comments
Amitriptyline | 10–25 | 150–300 | Marked sedation and anticholinergic effects.
Amitriptyline | 10–25 | 150–300 | Weight gain.
Amitriptyline | 10–25 | 150–300 | Orthostatic hypotension.
Amitriptyline | 10–25 | 150–300 | Dizziness.
Clomipramine | 25 | 100–250 | More serotonergic effects, less sedation, and fewer anticholinergic effects than other TCAs.
Desipramine | 25–50 | 100–300 | Mild sedation.
Desipramine | 25–50 | 100–300 | Minimal anticholinergic effects.
Doxepin | 10–25 | 75–300 | Marked sedation and anticholinergic effects.
Doxepin | 10–25 | 75–300 | Weight gain.
Doxepin | 10–25 | 75–300 | Orthostatic hypotension.
Doxepin | 10–25 | 75–300 | Dizziness.
Imipramine | 25–50 | 75–300 | Moderate sedation.
Imipramine | 25–50 | 75–300 | Weight gain.
Imipramine | 25–50 | 75–300 | Anticholinergic effects.
Imipramine | 25–50 | 75–300 | Orthostatic hypotension.
Imipramine | 25–50 | 75–300 | Dizziness.
Nortriptyline | 10–25 | 90–150 | Mild sedation.
Nortriptyline | 10–25 | 90–150 | Moderate anticholinergic effects.
NDRIs
Medication | Starting Dose (mg/day) | Maintenance Dose (mg/day) | Comments
Bupropion (IR, SR, and XL) | 100–150 (SR and XL) | 150–450 | Stimulating effects and lack of sexual dysfunction.
Bupropion (IR, SR, and XL) | 100–150 (SR and XL) | 150–450 | Dose-dependent seizure risk (rare), insomnia, headaches, and weight loss.
Bupropion (IR, SR, and XL) | 100–150 (SR and XL) | 150–450 | SR and XL commonly used to avoid anxiogenic effects and higher seizure risk associated with IR.
Atypical antidepressants
Medication | Starting Dose (mg/day) | Maintenance Dose (mg/day) | Comments
Mirtazapine | 7.5–15 | 30–45 | Frequently used in cancer patients with comorbid insomnia and cachexia. Known for its antinausea effects.
Mirtazapine | 7.5–15 | 30–45 | Decreased elimination in elderly.
Mirtazapine | 7.5–15 | 30–45 | Sedation, weight gain, and dizziness.
Mirtazapine | 7.5–15 | 30–45 | Risk of hepatotoxicity and neutropenia.
Trazodone | 25–50 | 50–200 | Primarily used as adjunct to other antidepressants. Useful for comorbid insomnia and anxiety.
Trazodone | 25–50 | 50–200 | Marked sedation and anxiolytic effects.
Trazodone | 25–50 | 50–200 | Risk of orthostatic hypotension, dizziness, and priapism (rare).
MAOIs /Psychostimulants as adjunctive treatments to antidepressants/ Other adjunctive treatments | See the text below for more information.

CYP = cytochrome P450 enzyme; GI = gastrointestinal; IR = immediate release; MAOI = monoamine oxidase inhibitor; NDRI = norepinephrine-dopamine reuptake inhibitor; SNRI = serotonin-norepinephrine reuptake inhibitor; SR = sustained release; SSRI = selective serotonin reuptake inhibitor; TCA = tricyclic antidepressant; XL = extended release.

^a^All antidepressants carry a boxed warning about the risk of suicidal thinking and behavior, risk of mania, and risk of drug-drug interaction when combined with MAOIs (for more information, see the MAOIs section).

^b^For more information about side effects associated with SNRIs, see the Serotonin-norepinephrine reuptake inhibitors (SNRIs) section.

The following sections describe the major antidepressant classes, their underlying mechanisms of action, their safety/tolerability profiles, and their potential use in cancer patient populations.[7,13]

##### Selective serotonin reuptake inhibitors

SSRIs are most commonly used in patients with cancer because they have better safety-tolerability profiles than other antidepressants. SSRIs block the reabsorption of serotonin (also called 5-hydroxytryptamine or 5-HT) by the presynaptic neurons by blocking the serotonin transporters. This causes more serotonin to be available to bind to the receptors of the postsynaptic neuron. Medications such as citalopram, escitalopram, and paroxetine work primarily by serotonin transporter blockade. Other SSRIs have additional mechanisms underlying their antidepressant effects. For example, fluoxetine binds to a specific serotonin receptor called the 5-HT_2c_ receptor, sertraline blocks dopamine transporters, and vilazodone has partial agonism at the 5-HT_1a_ serotonin receptor. The drugs in this class are similar in terms of their effectiveness. The most common side effects associated with this class of medications include:

- Gastrointestinal (GI) side effects (e.g., nausea, diarrhea, constipation).
- Sexual dysfunction (e.g., delayed ejaculation, anorgasmia, decreased libido).

However, the drugs differ in severity of these side effects and can have additional effects related to their impact on other neurobiological systems such as:

- Anticholinergic effects (e.g., cognitive difficulties, confusion, dry mouth, dry skin, constipation, blurred vision, urinary retention).
- Sedation.
- Insomnia.

SSRIs generally undergo hepatic metabolism, renal elimination, and differ significantly in terms of their half-lives. The half-life of the specific SSRI depends on the half-lives of the parent compound and the metabolite. The serotonin discontinuation syndrome, a syndrome associated with abrupt discontinuation of SSRIs, is related to the half-life of the SSRI and its active metabolites. The shorter the half-life of the SSRI and its metabolites, the higher the risk of serotonin discontinuation syndrome. For more information, see the Serotonin discontinuation syndrome section.

##### Serotonin-norepinephrine reuptake inhibitors (SNRIs)

SNRIs increase levels of both 5-HT and norepinephrine (NE) in the synapse by blocking reuptake of these neurotransmitters by their respective transporters. SNRIs differ in their blockade of 5-HT and NE transporters, depending on their affinity for these transporters. Venlafaxine is primarily serotonergic at lower dosages, with mixed 5-HT and NE effects at higher dosages. Duloxetine and desvenlafaxine are known to block both 5-HT and NE transporters at low dosages, while levomilnacipran has the highest noradrenergic effects at lower dosages, compared with other SNRIs. These different 5-HT and NE effects may be associated with differential efficacy and side effect profiles in different patient populations. For example, serotonergic effects may be more beneficial in the treatment of depression with comorbid anxiety, while noradrenergic effects may be more beneficial in the treatment of depression with atypical features such as hypersomnia, lack of energy, and lack of motivation.

Many of the SNRIs are also known for their positive impact on pain syndromes, including neuropathic pain associated with chemotherapy. Like SSRIs, SNRIs can cause GI side effects and sexual side effects. Other side effects associated with SNRIs result from their anticholinergic and antihistamine properties and include the following:

- Sedation.
- Dry mouth.
- Constipation.
- Dizziness (due to orthostatic hypotension).
- Blurred vision.
- Urinary retention.

The precise underlying mechanisms of these side effects remain unknown. Other side effects of SNRIs include dose-related diastolic hypertension and increased risk of cardiovascular side effects, primarily resulting from their noradrenergic effects. For this reason, a baseline electrocardiogram (ECG) is recommended in some cases. SNRIs are also associated with increased risk of headaches and excessive sweating. Certain SNRIs, specifically venlafaxine and desvenlafaxine, are known to treat hot flashes associated with menopausal symptoms. Similar to SSRIs, SNRIs also carry a risk of serotonin syndrome and serotonin discontinuation syndrome with abrupt discontinuation.

##### Tricyclic antidepressants

Similar to SNRIs, TCAs also increase levels of both 5-HT and NE in the synapse by blocking reuptake of these neurotransmitters by their respective transporters. TCAs are converted to secondary amine metabolites by demethylation in the liver. Both the primary amines and their secondary amine metabolites are active compounds. The secondary amine active metabolites of imipramine (desipramine) and amitriptyline (nortriptyline) are much more potent NE reuptake inhibitors.

TCAs are not commonly used as first-line agents due to high risk of cardiotoxicity and neurotoxicity, including risk of seizures. Use of TCAs requires extreme caution because overdoses of even small amounts can be fatal. A baseline ECG is recommended to evaluate for preexisting cardiac conduction abnormalities. Other side effects include risk of weight gain and anticholinergic effects. These side effects are more prominent with TCAs than SNRIs.

TCAs are primarily used as adjuncts in the treatment of refractory depression and in the treatment of comorbidities such as headaches, neuropathy, and insomnia. TCAs also carry a risk of serotonin syndrome and serotonin discontinuation syndrome with abrupt discontinuation.

##### Serotonin discontinuation syndrome

A discontinuation syndrome has been associated with stoppage of serotonergic antidepressants, both SSRIs and SNRIs.[14] This syndrome is particularly associated with abrupt discontinuation of these medications but can occur in certain cases even with gradual taper. The syndrome includes symptoms such as:

- Dysphoric mood.
- Anxiety.
- Headaches.
- Dizziness.
- Confusion.
- Agitation.
- Sensory disturbances (such as paresthesia).
- Insomnia.
- Autonomic instability and seizures in rare cases.

The syndrome is generally self-limiting but in rare cases requires medical attention. The treatment may include re-initiation of serotonergic medications at lower dosages, with gradual taper of these medications over a longer period. Gradual tapering of all serotonergic medications, especially medications with short half-lives such as paroxetine, is strongly recommended to avoid discontinuation syndrome. When taper schedules are recommended, it is also critical to consider individual patient factors such as history of discontinuation syndromes.

##### Serotonin syndrome

Serotonin syndrome [15] can result from a high dose of one serotonergic medication. More frequently, it is caused by inadvertent concomitant use of two or more serotonergic medications (e.g., serotonergic antidepressants with tramadol, fentanyl, triptans, St. John’s wort, or monoamine oxidase inhibitors [MAOIs]). This syndrome may include the following:

- GI symptoms (e.g., nausea, vomiting, and diarrhea).
- Neuromuscular symptoms (e.g., rigidity, tremors, myoclonus, and hyperreflexia).
- Autonomic instability in extreme cases (e.g., labile blood pressure, tachycardia, hyperthermia, and flushing).
- Mental status changes in extreme cases (e.g., agitation, delirium, and coma).

Careful review of all medications is recommended before any serotonergic medication is added to a patient’s medication regimen.

##### Norepinephrine-dopamine reuptake inhibitors

Bupropion is the only medication with this mechanism of action. It blocks the dopamine transporter while its primary metabolite, 6-hydroxybupropion, is a potent NE reuptake inhibitor. Bupropion may be more effective in the treatment of atypical depression (i.e., depression with fatigue and hypersomnia). It is a unique alternative to SSRIs and SNRIs for treating persons with depression and cancer, especially when depression is accompanied by fatigue. Unlike serotonergic antidepressants, bupropion is not associated with sexual dysfunction; therefore, it may be useful in treating patients who wish to remain sexually active and those who have experienced sexual dysfunction with other antidepressants.

Bupropion is available in three formulations based on frequency of administration:[16]

- Immediate release (three times daily).[17]
- Sustained release (twice daily).[18]
- Extended release (once daily).[19]

The sustained- and extended-release formulations are used more frequently because of the ease of administration and less risk of certain side effects, such as anxiety and seizures. The risk of seizures with bupropion is low but can be increased substantially by predisposing factors such as the following:[16-19]

- History of seizures.
- Head trauma.
- Brain tumor.
- Eating disorders.

Bupropion should be avoided in patients with malignant diseases involving the brain and histories of cranial trauma or seizure disorder,[16] and it is contraindicated in people with a history of bulimia.[20][Level of evidence: II] Other potential side effects with bupropion include anxiety and insomnia.

##### Antidepressants with mixed pharmacological properties

The antidepressants in this category have multiple pharmacological properties, including combinations of blockade of monoamine transporters and direct receptor agonist or antagonist properties.[7,13]

###### Mirtazapine

Mirtazapine is an alpha-2 adrenergic receptor antagonist, blocks several serotonin receptors (5-HT_2a_, 5-HT_2c_, and 5-HT_3_), and is a potent H_1_ histamine receptor antagonist. Its blockade of presynaptic alpha-2 adrenergic receptors causes the release of NE which, in turn, causes the release of 5-HT. This increase in NE and 5-HT and blockade of 5-HT_2c_ and 5-HT_3_ receptors have been associated with mirtazapine’s antidepressant effects. The potent antihistaminic effects of mirtazapine can cause significant sedation; in addition, its blockade of histaminic and 5-HT_2c_ receptors has been associated with increased appetite/weight gain, and its blockade of 5-HT_3_ receptors causes mild antiemetic effects. Mirtazapine has minimal risk of drug-drug interactions because it does not have significant impact on cytochrome P450 enzymes. The sedation and increased appetite/weight gain side effects can be beneficial in patients with cancer struggling with insomnia and cachexia.

Mirtazapine is frequently used for cancer patients, specifically for the treatment of depression with comorbid insomnia and weight loss. It is also useful in this patient population because of the following:

- Minimal risk of drug-drug interactions.
- Mild antiemetic effects.
- Minimal impact on sexual function.

Mirtazapine is associated with agranulocytosis/neutropenia and increased liver enzymes in rare cases. Monitoring of blood counts and liver enzymes is necessary, especially when patients are at risk of these side effects because of comorbid conditions and other cancer treatments. In rare cases, mirtazapine carries the risk of serotonin syndrome, primarily when taken in combination with other potent serotonergic medications; it is not associated with serotonin discontinuation syndrome. For more information, see the Serotonin syndrome section.

###### Trazodone

Trazodone is a 5-HT_2a_ and 5-HT_2c_ receptor antagonist and weak serotonin reuptake inhibitor. It can be very beneficial as an adjunct in the treatment of depression with comorbid insomnia and anxiety. It has potent sedative effects even at low dosages because of its blockade of histamine, 5-HT_2c_ receptors, and alpha-1 receptors. Trazodone is primarily used at low dosages (25–150 mg) to treat insomnia with or without depression/anxiety. Only high dosages (150–600 mg) of trazodone are associated with antidepressant effects. However, such high dosages carry a high risk of side effects, especially risk of significant daytime sedation, dizziness due to orthostatic hypotension, and other cardiovascular risks.

###### MAOIs

MAOIs increase all three monoamines (dopamine, serotonin, and NE) simultaneously because of their inhibition of MAO enzymes. The older MAOIs cause irreversible inhibition of both MAO-A and MAO-B enzymes. These medications can be highly effective, especially in the treatment of refractory depression and anxiety symptoms. However, MAOIs are primarily used as last resort because of their risk of serious side effects, multiple drug-drug interactions, and the significant dietary restrictions patients must adhere to when using these medications.

Several classes of medications are contraindicated or used with extreme caution with MAOIs because of the risk of serious and even lethal interactions due to serotonin syndrome and hypertensive crisis. Such classes of medications include the following:

- Sympathomimetics.
- Anesthetics.
- Other noradrenergic agents.
- Serotonergic agents.
- Dopaminergic agents.

Opioids with serotonergic properties, such as meperidine and methadone, should also be avoided with MAOIs. Patients taking MAOIs must follow strict dietary restrictions to avoid potentially fatal hypertensive crises. Avoiding foods that contain significant amounts of tyramine (e.g., aged cheese and meats) is critical when these medications are taken. The hypertensive crisis with MAOIs is related to the rapid increase in NE levels because of lack of tyramine processing by the MAO enzymes. Other common side effects include orthostatic hypotension, dizziness, anticholinergic side effects, and headaches.

MAOIs include selegiline, phenelzine, and tranylcypromine. Selegiline, a reversible MAOI, is available as a transdermal patch. At low dosages, it is primarily a selective MAO-B inhibitor and therefore does not require dietary restrictions (up to 9-mg doses). Because of selegiline’s transdermal delivery, at higher doses it still bypasses most of the MAO-A enzyme in the gut while inhibiting both MAO-A and MAO-B in the brain needed for antidepressant effects. However, patients receiving high doses are required to follow dietary restrictions because of the potential for inhibition of MAO-A enzyme in the gut. Higher doses carry warnings for drug-drug interactions and other side effects similar to those for older MAOIs.

In patients with cancer, the use of MAOIs is limited to highly refractory cases due to additional cancer and cancer treatment–related risk factors (e.g., cardiovascular comorbidities due to certain cancer treatments and the use of pain medications such as tramadol and methadone). In most cases, MAOIs are prescribed and managed by psychiatric clinicians in this patient population because of the multiple risks noted earlier. At a minimum, significant involvement of psychiatric prescribers and pharmacy consultation are strongly recommended during initiation and management of MAOIs.

#### Augmentation strategies

A patient may show improvement with the primary antidepressant treatment, but this improvement may be inadequate from a clinical standpoint because of significant residual symptomatology affecting the patient’s well-being and functioning. In such cases, certain augmentation strategies may be helpful.[21] However, before any augmentation strategies are considered, it is critical to ensure the adequacy of the primary antidepressant, especially in terms of dosing and duration. Selection of the augmentation strategy is driven by residual or comorbid symptomatology. The following sections describe certain augmentation agents and strategies.

##### Benzodiazepines

Benzodiazepines can be used to effectively treat the anxiety that may be associated with depression. In patients receiving antidepressant medications and benzodiazepines concomitantly, the latter drugs may be discontinued after patients’ depressive symptoms begin to abate; however, both agents can be continued safely if needed. Benzodiazepines cannot be stopped abruptly because withdrawal symptoms with possible seizures may occur. The dose of benzodiazepines is tapered slowly, at a rate of approximately 25% every 3 to 4 days.

##### Psychostimulants

Clinical experience suggests that analeptic agents (e.g., methylphenidate and dextroamphetamine) are useful at low doses for patients whose symptoms include the following:[22][Level of evidence: II]

- Depressed mood.
- Apathy.
- Decreased energy.
- Poor concentration.
- Weakness.

These agents are usually prescribed at low dosages and as adjuncts to antidepressants. Analeptic agents are particularly useful for patients with advanced cancer who have a limited life expectancy (weeks to a few months). Psychostimulants often demonstrate antifatigue effects within a few days of starting treatment. They can be helpful in countering the sedating effects of opioids.

Adverse effects associated with analeptic agents include neuropsychiatric side effects such as insomnia, mood lability, anxiety, agitation, anorexia, and even psychotic symptoms. They are also associated with adverse cardiovascular effects such as hypertension and arrhythmia. A baseline ECG is recommended. These medications can also lower the seizure threshold. Finally, there is a risk of developing tolerance, misuse, and dependence on these medications. Considering risks and benefits is critical when the use of these medications is being contemplated. These medications, in appropriate cases and when used in optimal dosages, can have a significant positive impact on a patient’s quality of life, especially for those with advanced cancers.

##### Adjunctive medications to treat medical and psychiatric comorbidities

Medical and psychiatric comorbidities (e.g., neuropathy, menopausal symptoms, and trauma symptoms) may play a role in depression severity. Such conditions frequently have a bidirectional interaction with depression, with one exacerbating the other and vice versa. Medications other than antidepressants that can treat medical/psychiatric comorbidities may play a crucial role in the management of depression in patients with psychiatric comorbidities. For example, gabapentin can be used as an adjunct to antidepressants to target comorbid neuropathic pain, menopausal symptoms, and anxiety symptoms.

##### Adjunctive medications in treatment-refractory cases

Evidence from the noncancer (general psychiatry) literature suggests a role for other medications and medication classes as adjuncts to antidepressants in treatment-refractory cases.[21] Such medications and medication classes include the following:

- Antipsychotic medications.
- Thyroid hormone.
- Lithium.
- Buspirone.
- Certain combination strategies for different antidepressant classes.

Buspirone is primarily used as an adjunct to treat comorbid anxiety symptoms. Some of these medications (e.g., antipsychotic medications and lithium) are associated with a significant burden of side effects. Referral to and/or extensive involvement of psychiatric clinicians is strongly recommended for treatment-refractory cases, especially if these medications and medication classes are considered as adjuncts.

#### Antidepressant medication selection and management

Several general, cancer-related, and cancer treatment–related factors play an important role in the choice and management of antidepressants in cancer patients.[23,24] The general risks-benefits-alternatives principle is even more crucial in the selection of depression treatment for this patient population. Furthermore, full informed consent and patients’ active involvement in decisions about their treatments is critical in the selection and management of depression treatment and for the success of any antidepressant trial.

##### Targeting symptoms

The predominance or lack of specific symptoms of depression (e.g., fatigue, insomnia, and cognitive difficulties) and related psychiatric comorbidities (e.g., anxiety disorders) play a role in the selection of an antidepressant.[24] For example, patients with fatigue as the predominant part of their depressive symptomatology may benefit from a trial of bupropion. The side effects of antidepressants may be clinically advantageous in some cases. For example, the sedation and weight gain associated with mirtazapine or certain TCAs may benefit depressed patients with comorbid insomnia and weight loss.

##### Avoiding side effects

Patients with cancer frequently struggle with multiple physical and psychological adverse effects related to their cancer and cancer treatments. It is critical to select antidepressants to avoid further worsening of their health status, either by addition of side effects due to antidepressants or exacerbation of existing issues. For example, patients with cancer may be struggling with issues concerning their sexual function. Antidepressants exacerbating sexual dysfunction can heighten distress, which can worsen depression. Some patients may struggle with the GI side effects of their cancer and cancer treatments. Certain antidepressants with known risks for significant GI side effects such as nausea and diarrhea (e.g., sertraline and duloxetine) may need to be avoided in these patients.

##### Medical comorbidities

The presence or absence of certain medical comorbidities can drive antidepressant selection.[24] For example, medications such as citalopram, which carries a warning about QTc prolongation, or potent noradrenergic antidepressants such as levomilnacipran may need to be avoided in patients with significant cardiovascular comorbidities. In patients with depression with comorbid chemotherapy-related neuropathy, duloxetine may be beneficial because it targets both depression and neuropathic symptoms. Similarly, patients with depression and menopausal symptoms may benefit from a trial of venlafaxine because it is known to treat both.

##### Antidepressant pharmacology

Antidepressants, even from the same class, can have significant pharmacological differences. They can differ in their absorption; half-lives, including half-lives of their active metabolites; and metabolism via an impact on different cytochrome P450 enzymes. These differences can play an important role, depending on cancer types and cancer treatments.

##### Concomitant medications

Consideration of pharmacodynamic and pharmacokinetic interactions with concomitant medical and psychiatric medications is critical when an antidepressant is being contemplated. For example, highly sedating antidepressants, such as mirtazapine, are not desirable in combination with sedating concomitant medications, such as opioids and benzodiazepines. Potent 2D6 cytochrome P450 enzyme inhibitors, such as paroxetine and duloxetine, are not recommended for patients receiving tamoxifen because of concerns about their impact on the efficacy of tamoxifen (because of the inhibition of tamoxifen’s conversion to endoxifen, its active metabolite).

##### Antidepressant trials for patient and biological family members

Information collected from patients and family members about experience with antidepressants (i.e., positive responses or negative experiences such as side effects) can be crucial in the selection of an antidepressant. Genetic background (e.g., serotonin transporter polymorphism) shared by the patient and biological family members may play a role in responsiveness to specific medications or medication classes. Information about successful or failed antidepressants for biological family members can play an important role in antidepressant selection.

##### Formulations

The availability of antidepressant formulations may play a crucial role in antidepressant selection for certain patient populations with cancer. For example, patients with head and neck cancers may have difficulty swallowing because of the disease, its treatment, or both. In such cases, the use of antidepressants in liquid form (e.g., citalopram and fluoxetine) or parenteral form (e.g., amitriptyline injection) may be necessary.

##### Bioavailability

Certain cancers can affect medication absorption (e.g., GI cancers) or metabolism (e.g., liver and kidney cancers). Antidepressant selection may therefore be driven by the pharmacokinetic profile of individual antidepressants to circumvent any issues. In some cases, antidepressant dosages may need to be adjusted beyond recommended guidelines to derive maximum therapeutic benefit.

##### Initial titration and management

Generally, there is a long latency period (3–6 weeks) from initiation of antidepressant medications to the onset of a therapeutic response.[13] Antidepressant treatment begins at low doses, followed by a period of gradual dose titration to achieve an optimum individualized response. Initial low doses may help to avoid initial side effects, but dose escalation may be required to produce therapeutic effects. For some agents, there is a therapeutic window during which plasma concentrations correlate with a patient’s response to the antidepressant (e.g., nortriptyline). For patients receiving these agents, serial drug concentration monitoring guides therapy and helps provide an adequate therapeutic trial because plasma concentrations lower and higher than the defined therapeutic ranges are associated with treatment failure, suboptimal responses and, in the case of high drug concentrations, unnecessary toxicity.

It is recommended that an antidepressant be continued for at least 1 year for a major depressive episode. Continuation of an antidepressant beyond 1 year depends on several factors, including a patient’s psychological status at that time, their psychiatric history, their cancer and cancer treatment status and, more important, their thoughts about and experience with the antidepressant. As in the initiation, decisions are individualized according to the risks-benefits-alternatives principle and patient choice.

##### Switching or discontinuing antidepressants

Switching from one antidepressant to another or discontinuing antidepressants is frequently indicated because of intolerable adverse effects or lack of treatment response. Several factors play a role in the strategies employed during switching or stopping an antidepressant. These factors are primarily driven by the risk of serotonin syndrome (see the Serotonin syndrome section for more information) and serotonin discontinuation syndrome (see the Serotonin discontinuation syndrome section for more information). Such factors include antidepressant-dependent factors and patient- or illness-related factors:[25,26]

Antidepressant-dependent factors
- Half-life of the antidepressant (i.e., shorter half-life is associated with higher risk of withdrawal symptoms).
- Antidepressant dose (i.e., higher dose needs a longer taper period).
- Duration (i.e., longer duration of antidepressant use may need a longer taper period).

Patient- or illness-related factors
- History of withdrawal symptoms with discontinuation of antidepressants.
- History of heightened sensitivity to medication side effects.
- Severity of psychiatric symptomatology (i.e., more caution is needed with higher severity).
- Medical and physical comorbidities.
- Concomitant medications.

Generally, when antidepressants are switched, either (1) discontinuing one antidepressant followed by initiating the new one or (2) gradual cross-tapering between the two antidepressants is recommended. However, given the lack of controlled evidence, the switching strategy is highly individualized and driven by the pharmacological properties of both antidepressants and specific patient- and illness-related factors.[27] There are differing opinions about the exact duration and schedule of dose titration because of the lack of evidence from controlled trials in this area.[27]

Switching from a serotonergic antidepressant with a longer half-life (or one that has an active metabolite with a longer half-life, e.g., fluoxetine) to another serotonergic antidepressant may carry the risk of developing serotonin syndrome, depending on when one medication is stopped and the second one is started. The risk of serotonin syndrome in these cases will also depend on the doses of both medications and the schedule of cross-taper.[27] For more information, see the Serotonin syndrome section.

For the discontinuation of serotonergic antidepressants, it is strongly recommended that antidepressants be tapered gradually to minimize the risk of serotonin discontinuation syndrome. For more information, see the Serotonin discontinuation syndrome section.

As with switching antidepressants, specific medication-related factors and patient- or illness-related factors need to be considered when patients are tapered off antidepressants, but the precise taper strategy is highly individualized. The half-life of antidepressants is a critical factor in stopping antidepressants. Generally, the shorter the half-life of an antidepressant, the higher the risk of discontinuation syndrome. See Table 4 for a list of antidepressants and the risk of serotonin discontinuation syndrome.

Table 4. Antidepressants and Risk of Serotonin Discontinuation Syndrome

Agent | Risk^a^ | Comment(s)
SSRIs
Citalopram | ++
Escitalopram | ++
Fluoxetine | | Very long half-life; generally, no taper required
Fluvoxamine | ++
Paroxetine | +++
Sertraline | ++
Vilazodone | ++
SNRIs
Desvenlafaxine | + | ~2% risk
Duloxetine | ++
Levomilnacipran | ++
Venlafaxine | +++
TCAs
Clomipramine | ++ | Most serotonergic TCA
Other TCAs | +
Other antidepressants
Bupropion | | Minimal to no risk
MAOIs
Mirtazapine | | Minimal to no risk
Trazodone | | Doses <150 mg/d carry minimal to no risk

MAOI = monoamine oxidase inhibitor; SNRI = serotonin-norepinephrine reuptake inhibitor; SSRI = selective serotonin reuptake inhibitor; TCA = tricyclic antidepressant; + = low risk; ++ = moderate risk; +++ = high risk.

^a^Risk based on half-life of antidepressant.

Educating patients about what to expect, close clinical monitoring, and frequent reassurance are crucial during the switching or discontinuing of antidepressants. Consultation with pharmacy or psychiatric services is generally recommended for switching or stopping. In a minority of cases, despite gradual tapering, patients may experience severe withdrawal symptoms, sometimes lasting several weeks. In such cases, immediate consultation with psychiatric services is strongly recommended.

#### Interferon-related depression

Most antidepressant prescribing is directed at the treatment of an existing depressive disorder or significant depressive symptoms. However, one study supports the use of antidepressants to prevent depression in patients receiving high-dose interferon for adjuvant therapy of malignant melanoma.[28][Level of evidence: I] The rationale for this approach is that treatment with high-dose interferon is associated with a particularly high rate of depression in this patient population, and proinflammatory cytokines implicated in the biological changes that result in depression may be directly reduced by antidepressants.

In a double-blind study of patients receiving high-dose interferon, 2 of 18 patients in the paroxetine group developed depression during the first 12 weeks of therapy, compared with 9 of 20 patients in the placebo group (relative risk [RR] = 0.24; 95% confidence interval [CI], 0.08–0.93). Moreover, there were significantly fewer treatment discontinuations in the paroxetine group (5% vs. 35%, RR = 0.14; 95% CI, 0.05–0.85).[28] Further study is required to confirm these findings and to determine whether prophylactic use of antidepressants has benefit in other treatment settings.

#### Suicide risk of antidepressant medications

Over the past few years, significant concerns have been raised about the risk of suicidal thinking and behavior with the use of antidepressants in children, adolescents, and young adults. In October 2004, the U.S. Food and Drug Administration (FDA) mandated pharmaceutical companies to add a boxed warning to the labeling of all antidepressants suggesting increased risk of suicidality in pediatric patients who were taking antidepressants. The FDA revised this boxed warning in May 2007 to include young adults younger than 25 years.[29] The carefully worded revision emphasized that the risk of suicidality is associated with both antidepressants and depression. In addition to raising concerns about increased suicidality in children, adolescents, and young adults, the warning acknowledged a significant protective effect of antidepressants in adults aged 65 years and older.

The meta-analysis that led to the initial boxed warning in pediatric patients concluded that the antidepressants are associated with a twofold increase in suicidal ideation and behavior compared with the placebo in children and adolescents.[30] A major meta-analysis published in the Journal of the American Medical Association re-analyzed the data from the child and adolescent studies (including seven studies not included in the initial meta-analysis), using a random-effects model.[31][Level of evidence: I] While this re-analysis found an overall increased risk of suicidal ideation/suicidal behavior consistent with the initial meta-analysis, the pooled risk differences were found to be smaller and statistically insignificant.

Concerns have been raised that the unintended consequence of the warnings will be overly restricted use of antidepressants among those who benefit the most and, hence, an increase in suicidality that the warning seeks to prevent.

In summary, the risks-benefits-alternatives principle favors appropriate use of antidepressants with careful monitoring for suicidality. None of the studies that led to the boxed warning included or focused on patients being treated for cancer. Clinical experience and results of small clinical trials suggest that antidepressants can be safely administered to adult cancer patients, although there are no large controlled clinical trials to support this position. When antidepressants are prescribed for patients with cancer, implementation of a careful monitoring plan should be considered by individuals with expertise, and consultation referral made for patients who do not respond as anticipated or who present other concerns.

### Psychotherapy

#### Overview

Traditionally, depressive symptomatology was managed with insight-oriented psychotherapy, which is quite useful for some people with cancer. For many other people, these symptoms are best managed with some combination of crisis intervention, brief supportive psychotherapy, and cognitive-behavioral techniques.

Psychotherapy for depression has been offered in a variety of forms. Most interventions have been time limited (range, 4–30 hours), have been offered in both individual and small-group formats, and have included a structured educational component about cancer or a specific relaxation component.[32]

Cognitive-behavioral psychotherapy has been one of the most prominent types of therapies studied. Cognitive-behavioral interventions focus on the following:

- Altering specific coping strategies aimed at improving overall adjustment.
- Specific thoughts and their relationship to emotions and behaviors.

Understanding and altering one’s thoughts can change emotional reactions and accompanying behaviors. For example, frequent, intrusive, uncontrollable thoughts about loss, life changes, or death can cause poor concentration and precipitate feelings of sadness, guilt, and worthlessness. In turn, these feelings can result in increased sleep, withdrawal, and isolation. A cognitive-behavioral intervention focuses on the intrusive thoughts, often challenging their accuracy or rationality and noting specific patterns of cognitive distortions. Simultaneously, patients develop specific cognitive coping strategies that are designed to alter emotional reactions and accompanying behaviors. The result is improved coping, enhanced adjustment, and better overall quality of life.

Other goals of psychotherapy include:[33][Level of evidence: II];[34-36][Level of evidence: I];[37]

- Enhancing coping skills.
- Directly reducing distress.
- Improving problem-solving skills.
- Mobilizing support.
- Reshaping negative or self-defeating thoughts.
- Developing a close personal bond with a knowledgeable, empathic health care provider.

Consultation with a cleric or a member of a pastoral care department may also help some individuals.

Specific goals of these therapies include the following:

- Assist people with cancer and their families by answering questions about the illness and its treatment, clarifying information, correcting misunderstandings, giving reassurance, and normalizing responses to the illness and its effect on patients’ families. Explore the present situation with the patient and how it relates to his or her previous experiences with cancer.
- Assist with problem solving, bolster the patient’s usual adaptive defenses, and help the patient and family develop further supportive and adaptive coping mechanisms. Identify maladaptive coping mechanisms and assist the family in developing alternative coping strategies. Explore areas of related stressors (e.g., family role and lifestyle changes), and encourage family members to support and share concerns with each other.
- When the focus of treatment changes from cure to palliation, strongly reinforce that, although curative treatment has ended, the team will aggressively treat symptoms as part of the palliation plan; the patient and family will not be abandoned; and staff members will work very hard to maintain comfort, control pain, and maintain the dignity of the patient and his or her family members.

Cancer support groups can be useful adjunctive therapies in the treatment of cancer patients.[38][Level of evidence: II] Support group interventions have demonstrated the following:[39]

- Significant effects on mood disturbance.
- Use of positive coping strategies.
- Improvement in quality of life.
- Positive immune responses.

Support groups can be found through the Cancer Support Community (https://www.cancersupportcommunity.org/), the American Cancer Society (https://www.cancer.org/), and many other community resources, including the social work departments of medical centers and hospitals.

#### Empirical studies of the efficacy of psychotherapy

Psychotherapy as a treatment for depression in the general adult mental health population has been extensively researched and found to be effective.[40] Reviews have also concluded that psychotherapy is an effective intervention for cancer patients experiencing depression.[41][Level of evidence: II];[32] In studies designed to prevent the occurrence of depression (i.e., patients not selected because of their depressive symptoms), intervention effects are positive, although small to moderate effect sizes have been reported (effect size range, 0.19–0.54).[32] However, in those studies in which patients were intentionally selected because they exhibited depressive symptoms, intervention effects were strong (effect size, 0.94).[41] An effect size of 0.94 indicates that the average patient in the treatment group was advantaged, compared with approximately 82% of patients in the control group.

One well-designed randomized clinical trial of a cognitive-behavioral intervention for depressed cancer patients investigated the effect of problem-solving training on symptoms of depression.[42][Level of evidence: I] The intervention consisted of 10 1.5-hour weekly individual psychotherapy sessions focused on training to become an effective problem solver. Problem-solving tasks were emphasized, including skills in the following aspects:

- Better defining and formulating the nature of problems.
- Generating a wide range of alternative solutions.
- Systematically evaluating consequences of a solution while deciding on an optimal one.
- Evaluating outcome after solution implementation.

Between-session homework with tasks relevant to each step was assigned, and patients were provided with a written manual and encouraged to refer to it as problems arose. One hundred thirty-two adult cancer patients were randomly assigned to the problem-solving treatment (PST), PST with a significant other, or a wait-list control. Overall results showed that PST (alone or with a significant other) improved problem-solving abilities and clinically significantly decreased symptoms of depression.[42]

A potential intervention to address depression in survivors is mindfulness meditation and survivorship education. In a randomized clinical trial of 247 younger breast cancer survivors, compared with a wait-list control group, both groups had decreased depression from preintervention to postintervention.[43][Level of evidence: I] Notably, the improvements were maintained 6 months postintervention. The mindfulness meditation group also showed improvements that were sustained over 6 months for fatigue, insomnia, and vasomotor symptoms (e.g., hot flashes and night sweats). These types of interventions may be beneficial for other cancer populations.

### Physical Activity

Physical activity for the management of depressive symptoms in individuals who completed treatment for breast cancer was studied in the Physical Activity for Cancer Survivors (PACES) randomized clinical trial. The trial included 336 participants, 3 months to 10 years after treatment for breast cancer, who were assessed to be insufficiently physically active (i.e., <150 min/wk engagement in moderate-to-vigorous physical activity).[44][Level of evidence: I] Using the block randomization method, participants were assigned into one of 16 cohorts, whose interventions ranged from receiving physical activity educational materials only (all participants) to the full cadre of PACES intervention components: educational materials, active living every day (ALED; 12 biweekly educational sessions), facility access (i.e., 6-month local fitness facility membership), Fitbit wearable device, and supervised exercise. A linear mixed-effects model using the self-rate Quick Inventory of Depression Symptomology as the outcome measure was used in the analyses. Depressive symptoms improved over time for all participants. The greatest improvement was for the ALED intervention component. This study provides some evidence that engagement in physical activity, especially through a supportive educational program such as ALED, may benefit individuals with depressive symptoms who have completed treatment for breast cancer.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Whooley MA, Simon GE: Managing depression in medical outpatients. N Engl J Med 343 (26): 1942-50, 2000.11136266 21012245
Hart SL, Hoyt MA, Diefenbach M, et al.: Meta-analysis of efficacy of interventions for elevated depressive symptoms in adults diagnosed with cancer. J Natl Cancer Inst 104 (13): 990-1004, 2012.22767203
Couper JW, Pollard AC, Clifton DA: Depression and cancer. Med J Aust 199 (S6): S13-6, 2013.25370277
Singer S, Danker H, Roick J, et al.: Effects of stepped psychooncological care on referral to psychosocial services and emotional well-being in cancer patients: A cluster-randomized phase III trial. Psychooncology 26 (10): 1675-1683, 2017.28665542
Haque R, Reading S, Irwin MR, et al.: Antidepressant medication use and prostate cancer recurrence in men with depressive disorders. Cancer Causes Control 33 (11): 1363-1372, 2022.36083407
Fisch M: Treatment of depression in cancer. J Natl Cancer Inst Monogr (32): 105-11, 2004.15263050
Laoutidis ZG, Mathiak K: Antidepressants in the treatment of depression/depressive symptoms in cancer patients: a systematic review and meta-analysis. BMC Psychiatry 13: 140, 2013.23679841
Stockler MR, O'Connell R, Nowak AK, et al.: Effect of sertraline on symptoms and survival in patients with advanced cancer, but without major depression: a placebo-controlled double-blind randomised trial. Lancet Oncol 8 (7): 603-12, 2007.17548243
Ashbury FD, Madlensky L, Raich P, et al.: Antidepressant prescribing in community cancer care. Support Care Cancer 11 (5): 278-85, 2003.12720073
Williams JW, Mulrow CD, Chiquette E, et al.: A systematic review of newer pharmacotherapies for depression in adults: evidence report summary. Ann Intern Med 132 (9): 743-56, 2000.10787370 20236988
Fisch MJ, Callahan CM, Kesterson JG, et al.: The use of an electronic patient record system to identify advanced cancer patients and antidepressant drug use. J Palliat Med 2 (4): 403-9, 1999.
Wong RL, El-Jawahri A, D'Arpino SM, et al.: Use of Antidepressant Medications Moderates the Relationship Between Depressive Symptoms and Hospital Length of Stay in Patients with Advanced Cancer. Oncologist 24 (1): 117-124, 2019.30082486
Gartlehner G, Hansen RA, Morgan LC, et al.: Comparative benefits and harms of second-generation antidepressants for treating major depressive disorder: an updated meta-analysis. Ann Intern Med 155 (11): 772-85, 2011.22147715
Haddad PM: Antidepressant discontinuation syndromes. Drug Saf 24 (3): 183-97, 2001.11347722
Iqbal MM, Basil MJ, Kaplan J, et al.: Overview of serotonin syndrome. Ann Clin Psychiatry 24 (4): 310-8, 2012.23145389
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
GlaxoSmithKline, LLC: Wellbutrin (bupropion hydrochloride) immediate-release tablets. Research Triangle Park, NC: GlaxoSmithKline, LLC, 2022. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2011/018644s043lbl.pdf). Last accessed June 27, 2024.
GlaxoSmithKline, LLC: Wellbutrin (bupropion hydrochloride) sustained-release (SR) tablets. Research Triangle Park, NC: GlaxoSmithKline, LLC, 2022. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2022/020358s066lbl.pdf). Last accessed June 27, 2024.
Bausch Health US, LLC: Wellbutrin (bupropion hydrochloride) extended-release (XL) tablets. Bridgewater, NJ: Bausch Health US, LLC, 2022. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2022/021515s044lbl.pdf). Last accessed June 27, 2024.
Horne RL, Ferguson JM, Pope HG, et al.: Treatment of bulimia with bupropion: a multicenter controlled trial. J Clin Psychiatry 49 (7): 262-6, 1988.3134343 88273040
Epstein I, Szpindel I, Katzman MA: Pharmacological approaches to manage persistent symptoms of major depressive disorder: rationale and therapeutic strategies. Psychiatry Res 220 (Suppl 1): S15-33, 2014.25539871
Homsi J, Nelson KA, Sarhill N, et al.: A phase II study of methylphenidate for depression in advanced cancer. Am J Hosp Palliat Care 18 (6): 403-7, 2001 Nov-Dec.11712722 21569122
Gartlehner G, Thaler K, Hill S, et al.: How should primary care doctors select which antidepressants to administer? Curr Psychiatry Rep 14 (4): 360-9, 2012.22648236
Grassi L, Caruso R, Hammelef K, et al.: Efficacy and safety of pharmacotherapy in cancer-related psychiatric disorders across the trajectory of cancer care: a review. Int Rev Psychiatry 26 (1): 44-62, 2014.24716500
Wilson E, Lader M: A review of the management of antidepressant discontinuation symptoms. Ther Adv Psychopharmacol 5 (6): 357-68, 2015.26834969
Ogle NR, Akkerman SR: Guidance for the discontinuation or switching of antidepressant therapies in adults. J Pharm Pract 26 (4): 389-96, 2013.23459282
Keks N, Hope J, Keogh S: Switching and stopping antidepressants. Aust Prescr 39 (3): 76-83, 2016.27346915
Musselman DL, Lawson DH, Gumnick JF, et al.: Paroxetine for the prevention of depression induced by high-dose interferon alfa. N Engl J Med 344 (13): 961-6, 2001.11274622 21146521
U.S. Food and Drug Administration: Suicidality in Children and Adolescents Being Treated With Antidepressant Medications. Rockville, Md: Food and Drug Administration, Center for Drug Evaluation and Research, 2018. Available online. (https://www.fda.gov/drugs/postmarket-drug-safety-information-patients-and-providers/suicidality-children-and-adolescents-being-treated-antidepressant-medications) Last accessed June 27, 2024.
Hammad TA, Laughren T, Racoosin J: Suicidality in pediatric patients treated with antidepressant drugs. Arch Gen Psychiatry 63 (3): 332-9, 2006.16520440
Bridge JA, Iyengar S, Salary CB, et al.: Clinical response and risk for reported suicidal ideation and suicide attempts in pediatric antidepressant treatment: a meta-analysis of randomized controlled trials. JAMA 297 (15): 1683-96, 2007.17440145
Barsevick AM, Sweeney C, Haney E, et al.: A systematic qualitative analysis of psychoeducational interventions for depression in patients with cancer. Oncol Nurs Forum 29 (1): 73-84; quiz 85-7, 2002 Jan-Feb.11817494
Forester B, Kornfeld DS, Fleiss JL: Psychotherapy during radiotherapy: effects on emotional and physical distress. Am J Psychiatry 142 (1): 22-7, 1985.3966583 85094657
Holland JC, Morrow GR, Schmale A, et al.: A randomized clinical trial of alprazolam versus progressive muscle relaxation in cancer patients with anxiety and depressive symptoms. J Clin Oncol 9 (6): 1004-11, 1991.2033413 91237385
Greer S, Moorey S, Baruch JD, et al.: Adjuvant psychological therapy for patients with cancer: a prospective randomised trial. BMJ 304 (6828): 675-80, 1992.1472184 92240127
Worden JW, Weisman AD: Preventive psychosocial intervention with newly diagnosed cancer patients. Gen Hosp Psychiatry 6 (4): 243-9, 1984.6489742 85028390
Lovejoy NC, Matteis M: Cognitive-behavioral interventions to manage depression in patients with cancer: research and theoretical initiatives. Cancer Nurs 20 (3): 155-67, 1997.9190090 97333985
Montazeri A, Jarvandi S, Haghighat S, et al.: Anxiety and depression in breast cancer patients before and after participation in a cancer support group. Patient Educ Couns 45 (3): 195-8, 2001.11722855 21580372
Fawzy FI, Fawzy NW, Hyun CS, et al.: Malignant melanoma. Effects of an early structured psychiatric intervention, coping, and affective state on recurrence and survival 6 years later. Arch Gen Psychiatry 50 (9): 681-9, 1993.8357293 93363040
Lambert MJ, Ogles BM: The efficacy and effectiveness of psychotherapy. In: Lambert MJ: Bergin and Garfield's Handbook of Psychotherapy and Behavior Change. 5th ed. John Wiley & Sons Inc, 2004, pp 139-93.
Sheard T, Maguire P: The effect of psychological interventions on anxiety and depression in cancer patients: results of two meta-analyses. Br J Cancer 80 (11): 1770-80, 1999.10468295
Nezu AM, Nezu CM, Felgoise SH, et al.: Project Genesis: assessing the efficacy of problem-solving therapy for distressed adult cancer patients. J Consult Clin Psychol 71 (6): 1036-48, 2003.14622079
Bower JE, Partridge AH, Wolff AC, et al.: Targeting Depressive Symptoms in Younger Breast Cancer Survivors: The Pathways to Wellness Randomized Controlled Trial of Mindfulness Meditation and Survivorship Education. J Clin Oncol 39 (31): 3473-3484, 2021.34406839
Rethorst CD, Carmody TJ, Argenbright KE, et al.: Considering depression as a secondary outcome in the optimization of physical activity interventions for breast cancer survivors in the PACES trial: a factorial randomized controlled trial. Int J Behav Nutr Phys Act 20 (1): 47, 2023.37081460

## Suicide Risk in Cancer Patients

### Demographics and Statistics

Epidemiological studies conducted across several countries indicate that cancer is a risk factor for suicide.[1-3][Level of evidence: III] One retrospective cohort study (N = 3,594,750) found that patients with cancer had nearly twice the incidence of suicide as the general population.[1] Another study (N = 6,754,704) found suicide rates three times higher than in the general population, and up to ten times higher in people with cancers with poorer prognosis, e.g., pancreatic cancer.[4] Increased rates of suicidal ideation, suicidal behaviors, and suicide attempts have been documented in patients with cancer compared with the general population.[3][Level of evidence: III];[5,6] The actual incidence of suicide in cancer patients is probably underestimated because there may be reluctance to report death by suicide in these circumstances and because of methodological issues related to the validity of suicide statistics.[7]

It is important to distinguish among suicidal ideation, attempted suicide, and actual suicide in assessing patients at greatest risk. Suicidal ideation is loosely defined as having thoughts, ideas, contemplation, wishes, and preoccupation with death and suicide. Some patients may have passive suicidal ideation, which is a general wish to end one’s life without an actual plan. A suicidal attempt is a planned and initiated suicide that does not result in death. An actual suicide is death through self-inflicted injury.[8]

Certain clinical and sociodemographic risk factors for suicide have been identified in patients with cancer.[3][Level of evidence: III];[9]

#### Gender

As in the general population, suicide risk is higher in male patients with cancer than in female patients.[3][Level of evidence: III] In adolescents and young adults (AYAs), however, suicide risk is higher in female patients, according to a study using Surveillance, Epidemiology, and End Results (SEER) Program data.[10][Level of evidence: III] Risk of suicide was measured by calculating the standardized mortality ratio (SMR) and odds ratio (OR). Specifically, the SMR is a percentage of the number of deaths (by suicide in this analysis) among the expected age- and sex-specific rates of death in a standard population. The OR was calculated for demographic and clinical factors associated with actual suicides in the AYAs. Of note, actual suicides were greater among male AYAs, consistent with the adult population.

#### Age and marital status

Older age is another significant risk factor for suicide in patients with cancer. One group of investigators found that suicide risk increased with age, with older men at the highest risk.[1] This study found that the age-adjusted suicide rate was 52.4 per 100,000 person-years among patients aged 80 to 84 years, compared with 22.0 per 100,000 person-years for the same age group in the general population. Notably, the suicide rate for men with cancer in this age group was substantially higher (100.3 per 100,000 person-years) than the suicide rate for women. Race and marital status also played an important role. Single, divorced, or widowed White men had a higher suicide risk than other patient populations.[11]

#### Social and structural health determinants

Suicide risk also differs by social and structural health determinants. An investigation of more than 5.3 million individuals with cancer across 635 counties included in the SEER 18 database found that among the 6,357 of these individuals who died of suicide, the SMR of suicide among those in the lowest-income counties, compared with those in the highest-income counties, was significantly higher (SMR, 1.94; 95% confidence interval [CI], 1.76–2.13 vs. SMR, 1.30; 95% CI, 1.26–1.34).[12][Level of evidence: III] Similarly, compared with individuals with cancer in urban counties (SMR, 1.35; 95% CI, 1.32–1.39), those in rural counties had a higher SMR of 1.81 (95% CI, 1.70–1.92). In addition, the suicide rates among individuals with cancer were higher in counties that had lower educational levels, greater unemployment rates, and a higher percentage of Black residents.

#### Time since diagnosis

Another consistent risk factor is related to the time since diagnosis. Studies have consistently found higher risk of suicide in the first year after diagnosis, especially in the first 6 months.[3][Level of evidence: III];[4,13,14] Generally, this risk declines over time. However, for certain cancer types, there is evidence of increased long-term suicide risk many years after the diagnosis.[2]

Poorer prognosis, nonlocalized disease, and aggressive or advanced cancer with a survival rate of fewer than 5 years have been found to be closely associated with higher suicide risk early after cancer diagnosis, with an even greater risk in populations with higher baseline risk factors (male, White race, aged 60 years and older).[4,9]

#### Cancer types

Certain cancer types have been associated with higher suicide risk, including the following:[1,14-17][Level of evidence: III]

- Pancreatic cancer.
- Head and neck cancer.
- Bladder cancer.
- Lung cancer.
- Cancers of the upper digestive tract.
- Brain cancer.
- Cervical cancer.

In addition, veteran survivors with head and neck cancer are at a particularly high risk for suicide. In a study of 7,803 U.S. veteran survivors of head and neck cancer (98.4% male; mean age, 65 years), the rate of suicidal self-directed violence was 922.7 per 100,000.[16][Level of evidence: III] The rate of death by suicide was 653.6 per 100,000. These rates far exceed those associated with male sex and older age.[1] Veterans treated for head and neck cancer should be screened for suicidal risk.

#### Comorbidities

Certain comorbidities have also been associated with higher suicide risk, including the following:[18,19]

- Substance use disorder.
- Cancer-related pain.
- Comorbid psychiatric illness, specifically depression and anxiety.

In a study of Japanese patients (n = 220) who had cancer and who were diagnosed with major depression after being referred for psychiatric consultation, approximately 50% reported suicidal ideation. In a retrospective analysis of predictors of suicidal ideation, researchers found that those with more symptoms of major depression and poorer physical functioning were significantly more likely to report suicidal ideation.[20]

### Summary of Risk Factors

Risk factors for suicide in the cancer population are as follows:[21]

- Sociodemographic factors:
  - Male sex.
  - Older age.
  - Single, divorced, or widowed status.
- Medical factors:
  - Advanced-stage, nonlocalized, or aggressive disease.
  - Poor prognosis (survival rate <5 years).
  - Recent cancer diagnosis (highest risk within 3–5 months after diagnosis).
  - Cancer site such as prostate, lung, head and neck, and pancreas.
  - Physical symptoms such as uncontrollable pain.
  - Decreased function and performance status.
  - Inadequately controlled pain.
- Psychiatric and psychosocial factors:
  - Comorbid depression or anxiety.
  - Feelings of hopelessness.
  - Demoralization.
  - Aggression; lack of therapeutic alliance with treatment team.
  - Preexisting psychopathology.
  - Comorbid substance use.
  - History of suicide attempts.
  - Family history of suicides.
  - Poor social support.
  - Loss of independence and feeling of being a burden; associated guilt.

### References

Misono S, Weiss NS, Fann JR, et al.: Incidence of suicide in persons with cancer. J Clin Oncol 26 (29): 4731-8, 2008.18695257
Schairer C, Brown LM, Chen BE, et al.: Suicide after breast cancer: an international population-based study of 723,810 women. J Natl Cancer Inst 98 (19): 1416-9, 2006.17018788
Hu X, Ma J, Jemal A, et al.: Suicide Risk Among Individuals Diagnosed With Cancer in the US, 2000-2016. JAMA Netw Open 6 (1): e2251863, 2023.36662522
Kinslow CJ, Kumar P, Olfson M, et al.: Prognosis and risk of suicide after cancer diagnosis. Cancer 130 (4): 588-596, 2024.38018695
Rasic DT, Belik SL, Bolton JM, et al.: Cancer, mental disorders, suicidal ideation and attempts in a large community sample. Psychooncology 17 (7): 660-7, 2008.18050260
Druss B, Pincus H: Suicidal ideation and suicide attempts in general medical illnesses. Arch Intern Med 160 (10): 1522-6, 2000.10826468
Hem E, Loge JH, Haldorsen T, et al.: Suicide risk in cancer patients from 1960 to 1999. J Clin Oncol 22 (20): 4209-16, 2004.15483032
Harmer B, Lee S, Rizvi A: Suicidal Ideation. In: StatPearls [Internet]. StatPearls Publishing, 2024, [no pagination]. Available online. (https://pubmed.ncbi.nlm.nih.gov/33351435/) Last accessed July 1, 2024.
Kendal WS: Suicide and cancer: a gender-comparative study. Ann Oncol 18 (2): 381-7, 2007.17053045
Heynemann S, Thompson K, Moncur D, et al.: Risk factors associated with suicide in adolescents and young adults (AYA) with cancer. Cancer Med 10 (20): 7339-7346, 2021.34586755
Llorente MD, Burke M, Gregory GR, et al.: Prostate cancer: a significant risk factor for late-life suicide. Am J Geriatr Psychiatry 13 (3): 195-201, 2005.15728750
Suk R, Hong YR, Wasserman RM, et al.: Analysis of Suicide After Cancer Diagnosis by US County-Level Income and Rural vs Urban Designation, 2000-2016. JAMA Netw Open 4 (10): e2129913, 2021.34665238
Yousaf U, Christensen ML, Engholm G, et al.: Suicides among Danish cancer patients 1971-1999. Br J Cancer 92 (6): 995-1000, 2005.15756279
Innos K, Rahu K, Rahu M, et al.: Suicides among cancer patients in Estonia: a population-based study. Eur J Cancer 39 (15): 2223-8, 2003.14522382
Lu D, Fall K, Sparén P, et al.: Suicide and suicide attempt after a cancer diagnosis among young individuals. Ann Oncol 24 (12): 3112-7, 2013.24169626
Nugent SM, Morasco BJ, Handley R, et al.: Risk of Suicidal Self-directed Violence Among US Veteran Survivors of Head and Neck Cancer. JAMA Otolaryngol Head Neck Surg 147 (11): 981-989, 2021.34617963
Potter AL, Haridas C, Neumann K, et al.: Incidence, Timing, and Factors Associated With Suicide Among Patients Undergoing Surgery for Cancer in the US. JAMA Oncol 9 (3): 308-315, 2023.36633854
Henriksson MM, Isometsä ET, Hietanen PS, et al.: Mental disorders in cancer suicides. J Affect Disord 36 (1-2): 11-20, 1995.8988260 97142010
Akechi T, Nakano T, Akizuki N, et al.: Clinical factors associated with suicidality in cancer patients. Jpn J Clin Oncol 32 (12): 506-11, 2002.12578898
Akechi T, Okamura H, Yamawaki S, et al.: Why do some cancer patients with depression desire an early death and others do not? Psychosomatics 42 (2): 141-5, 2001 Mar-Apr.11239127 21137618
Anguiano L, Mayer DK, Piven ML, et al.: A literature review of suicide in cancer patients. Cancer Nurs 35 (4): E14-26, 2012 Jul-Aug.21946906

## Assessment and Management of Suicidal Patients

### Assessment

Suicide assessment occurs frequently along the cancer continuum. Components of suicide assessment include the following:[1-3]

- Evaluation of risk factors.
- Patient’s mental state.
- Social context.
- Nonverbal signs of extreme distress or depression (such as poor eye contact, agitation, or excessive slowing of speech and movement).

Hopelessness is a powerful predictor of suicidal ideation and completed suicides in the general population and in cancer patients.[4] Certain suicide screening tools such as the following are used to screen for suicide risk in the general population and in patients with mental illness:[5]

- The Beck Hopelessness Scale.
- The Suicide Intent Scale.
- The Columbia-Suicide Severity Rating Scale.

However, these tools are not validated for cancer patients.[2]

Other complicating factors in suicide assessment include the demoralization syndrome and desire for hastened death.[6,7] The concept of demoralization syndrome involves persistent inability to cope with feelings of hopelessness, helplessness, and loss of meaning of life.[8] Demoralization syndrome can be assessed using the Demoralization Scale.[9] Evidence suggests that demoralization syndrome can be present with or without depression symptomatology in cancer patients.[10] A study conducted in Taiwanese patients (n = 200) found that demoralization was more predictive of suicidal ideation than was depression symptomatology.[6] The study found that the loss of meaning was a critical factor in the effect of demoralization on suicidal ideation.

The relationships between suicidal ideation and the desire for hastened death, requests for physician-assisted suicide and/or euthanasia are complex and poorly understood.[7,11] For more information, see the Requests for Hastened Death section in Last Days of Life. The desire for hastened death involves a hope for death to come quickly. Such a desire can be:[12,13]

- Psychopathological, as an expression of despair with an exit plan (idea of suicide).
- A socially driven desire to not be a burden to family or friends.
- A healthy process of closure, i.e., a manifestation of letting go.

Patients who are found to be suicidal require careful further assessment (see Table 5). The risk of suicide increases if the patient reports ideation (i.e., thoughts of suicide) plus a plan (i.e., description of the means). Risk continues to increase to the extent that the plan is lethal.[3] Lethality is determined by an assessment of how likely death would follow, if the reported plan were carried out.

Factors to consider in assessing lethality include:

- Availability of the means.
- Reversibility of the means. (Once begun, can it be stopped?)
- Proximity of help.

For the cancer patient reporting suicidal ideation, it is essential to determine whether the underlying cause is the following:[7]

- A depressive illness.
- A desire for hastened death.
- An expression of the desire to have ultimate control over intolerable symptoms.

Prompt identification and treatment of major depression is essential in lowering the risk of suicide in cancer patients. Risk factors, particularly hopelessness (which is an even stronger predictive factor for suicidal ideation and completed suicides than is depression), requires careful assessment.[4] The assessment of hopelessness is not straightforward in the patient with advanced disease with no hope of cure. It is important to assess the underlying reasons for hopelessness, which may be related to poor symptom management, fears of painful death, or feelings of abandonment.[14]

Establishing rapport is of prime importance in working with suicidal cancer patients as it serves as the foundation for other interventions. The clinician must believe that talking about suicide will not cause the patient to attempt suicide. On the contrary, talking about suicide legitimizes this concern and permits patients to describe their feelings and fears, providing a sense of control.[2,7] A supportive therapeutic relationship is maintained, which conveys the attitude that much can be done to alleviate emotional and physical pain. For more information, see Cancer Pain.

A crisis intervention–oriented psychotherapeutic approach that mobilizes as much of a patient’s support system as possible is initiated.[2] Contributing symptoms (e.g., pain) are aggressively controlled and depression, psychosis, agitation, and underlying causes of delirium are treated.[2 ,7] These problems are most frequently managed in the medical hospital or at home. Although uncommon, psychiatric hospitalization can be helpful when there is a clear indication and the patient is medically stable.[2]

Table 5. Suggested Questions for the Assessment of Suicidal Symptoms in People With Cancer^a^

Questions | Assessment
Most people with cancer have passing thoughts about suicide such as, “I might do something if it gets bad enough.” | Acknowledge normality by opening with a statement recognizing that a discussion does not enhance risk
Have you ever had thoughts like that? Any thoughts of not wanting to live or wishing your illness might hasten your death? | Level of risk
Do you have thoughts of suicide? Have you thought about how you would do it? Do you intend to harm yourself? | Level of risk
Have you ever been depressed or made a suicide attempt? | History
Have you ever been treated for other psychiatric problems, or have you been psychiatrically hospitalized before getting diagnosed with cancer? | History
Have you had a problem with alcohol or drugs? | Substance dependence
Have you lost anyone close to you recently? (Family, friends, others with cancer.) | Bereavement

^a^Adapted from Roth et al.[15]

### Management

In clinical practice, the goal of management of suicidal patients is to attempt to prevent suicide that is driven by desperation due to poorly controlled symptoms. Prolonged suffering due to poorly controlled symptoms can lead to such desperation. Thus, effective symptom management is critical to decrease psychological distress in suicidal cancer patients.[2,7] Patients close to the end of life may be unable to maintain a wakeful state without high levels of emotional or physical pain. This frequently leads to suicidal thoughts or requests for aid in dying. Such patients may require sedation to ease their distress.

At times, it may be important to limit access to potentially lethal medications for patients considered at risk of suicide. When potentially lethal medications are limited, it is important to weigh the impact on symptom management against the impact on suicide risk because poorly controlled symptoms may contribute to risk. Furthermore, suicidal patients will often have other means available to complete suicide attempts and these must also be evaluated. Strategies to lessen suicidal risk include frequent contact to reassess suicidal risk and symptom control, as well as regular delivery of limited quantities of medications facilitating rapid dose titration for effective management of poorly controlled symptoms when necessary. For patients receiving parenteral or intrathecal opioids, programmable pumps with limited access to programming and locked, inaccessible cartridges may provide an element of safety.

Strategies to lessen suicide risk in cancer patients include the following:

- Make a referral to a psychologist or other mental health professional.
- Use medications that work rapidly to alleviate distress (e.g., a benzodiazepine for anxiety or a stimulant for fatigue) while waiting for the clinical effects from antidepressant therapy.
- Pay scrupulous attention to symptom management.
- Limit access as appropriate to quantities of medications that are lethal in overdose and ensure that the family has a home-use naloxone kit in states/locations where available.
- Maintain frequent contact with and closely observe the patient.
- Avoid having the patient spend long periods of time alone.
- Mobilize support for the patient.
- Carefully assess the patient's psychological responses at each crisis point over the course of the disease.

### References

Spoletini I, Gianni W, Caltagirone C, et al.: Suicide and cancer: where do we go from here? Crit Rev Oncol Hematol 78 (3): 206-19, 2011.20605728
K Hughes M: Suicide Screening in the Oncology Population. J Adv Pract Oncol 7 (1): 101-104, 2016 Jan-Feb.27713849
Morriss R, Kapur N, Byng R: Assessing risk of suicide or self harm in adults. BMJ 347: f4572, 2013.23886963
Abbey JG, Rosenfeld B, Pessin H, et al.: Hopelessness at the end of life: the utility of the hopelessness scale with terminally ill cancer patients. Br J Health Psychol 11 (Pt 2): 173-83, 2006.16643692
Bolton JM, Gunnell D, Turecki G: Suicide risk assessment and intervention in people with mental illness. BMJ 351: h4978, 2015.26552947
Fang CK, Chang MC, Chen PJ, et al.: A correlational study of suicidal ideation with psychological distress, depression, and demoralization in patients with cancer. Support Care Cancer 22 (12): 3165-74, 2014.24935648
Cooke L, Gotto J, Mayorga L, et al.: What do I say? Suicide assessment and management. Clin J Oncol Nurs 17 (1): E1-7, 2013.23372105
Clarke DM, Kissane DW: Demoralization: its phenomenology and importance. Aust N Z J Psychiatry 36 (6): 733-42, 2002.12406115
Kissane DW, Wein S, Love A, et al.: The Demoralization Scale: a report of its development and preliminary validation. J Palliat Care 20 (4): 269-76, 2004.15690829
Lee CY, Fang CK, Yang YC, et al.: Demoralization syndrome among cancer outpatients in Taiwan. Support Care Cancer 20 (10): 2259-67, 2012.22120003
Anguiano L, Mayer DK, Piven ML, et al.: A literature review of suicide in cancer patients. Cancer Nurs 35 (4): E14-26, 2012 Jul-Aug.21946906
Filiberti A, Ripamonti C, Totis A, et al.: Characteristics of terminal cancer patients who committed suicide during a home palliative care program. J Pain Symptom Manage 22 (1): 544-53, 2001.11516596
Nissim R, Gagliese L, Rodin G: The desire for hastened death in individuals with advanced cancer: a longitudinal qualitative study. Soc Sci Med 69 (2): 165-71, 2009.19482401
Breitbart W, Passik SD: Psychiatric aspects of palliative care. In: Doyle D, Hanks GW, MacDonald N, eds.: Oxford Text Book of Palliative Medicine. Oxford University Press, 1993, pp 609-26.
Roth AJ, Holland JC: Psychiatric complications in cancer patients. In: Brain MC, Carbone PP, eds.: Current Therapy in Hematology-Oncology. 5th ed. Mosby-Year Book, Inc., 1995, pp 609-18.

## Considerations for Pediatric Depression

Information concerning the incidence of depression in healthy children is limited. One study of children seen in a general practice showed that 38% had problems that required major intervention by a psychiatrist. Another study of children aged 7 to 12 years showed a 1.9% incidence of depression. If applied to the general population of the United States, these results show that 40,000 12-year-olds are depressed. Teachers have estimated that as many as 10% to 15% of their students are depressed. The Joint Commission on Mental Health of Children states that 1.4 million children younger than 18 years need immediate help for disorders such as depression; only one-third of these children receive help for their disorder.[1]

Most children cope with the emotional upheaval related to cancer and demonstrate not only evidence of adaptation but positive psychosocial growth and development. A minority of children, however, develops the following psychological problems:[2]

- Depression.
- Anxiety.
- Sleep disturbances.
- Difficulties in interpersonal relationships.
- Noncompliance with treatment.

These children require referral to and intervention by a mental health specialist.

In one of the first studies of depression in childhood cancer, 114 children and adolescents were studied, and 59% were found to have mild psychiatric problems.[3] A study of 17 adolescent and 21 pediatric oncology patients, all of whom were administered a self-report psychosocial life events inventory, showed that the adolescent samples had a mean level of depressive symptoms similar to that of the general population. The pediatric oncology sample demonstrated significantly lower depressive symptoms than the general population.[4][Level of evidence: II] Forty-one adolescent survivors of childhood cancer were assessed using questionnaires and interviews to determine the psychosocial status of the survivors; most survivors were functioning well, and depression was rare.[5]

A study of long-term cancer survivors and their mothers, comparing the survivors with a group of 92 healthy children, showed that most former patients were functioning within normal limits. Not surprisingly, children with severe late effects had more depressive symptoms.[6][Level of evidence: II] One researcher looked at the characteristics of psychiatric consultations in a pediatric cancer center and found that adjustment disorder was the chief psychosocial diagnosis. This finding is similar to results obtained from studies of adult cancer patients. This study also found that anxiety reactions were more common in the younger pediatric patients, and depressive disorders were more common in older patients.[7] In a study conducted in 1988 with a sample of 30 adolescent cancer patients, the rate of major depression was not higher than the rate for the population at large.[8][Level of evidence: II] One review reported a 17% incidence of depression using the criteria of the Diagnostic and Statistical Manual of Mental Disorders, 3rd edition.[9]

Most cancer survivors demonstrate general resiliency and successful psychological adjustment to the disease and its treatment. Despite evidence for successful adaptation, most studies document psychological difficulties in a significant subset of cancer survivors.

### Assessment and Diagnosis of Pediatric Depression

#### Assessment

The term depression refers to a symptom, a syndrome, a set of psychological responses, or an illness.[1] Duration and intensity of the behavioral manifestation (e.g., sadness) differentiates the symptoms from the disorder. For example, a sad affect can be a child’s response to trauma and is usually of short duration; however, a depressive illness is characterized by long duration, and is associated with the following:

- Insomnia.
- Irritability.
- Changes in eating habits.
- Severe impairment of the child’s scholastic and social adjustment.

Depression should be considered whenever any behavior problem persists. Depression does not refer to transitory moments of sadness, but rather to a disorder that affects development and interferes with realization of the child’s innate potential.[1]

Some manifestations of depression in a school-aged child include the following:[1]

- Anorexia.
- Lethargy.
- Sad affect.
- Aggression.
- Weeping.
- Hyperactivity.
- Somatization.
- Fear of death.
- Frustration.
- Feelings of sadness or hopelessness.
- Self-criticism.
- Frequent daydreaming.
- Low self-esteem.
- School refusal.
- Learning problems.
- Slow movements.
- Vacillating hostility toward parents and teachers.
- Loss of interest in previously pleasurable activities.

Differentiating these symptoms from behavioral responses to normal developmental stages is important.

Assessment of depression includes determination of the child’s:[10]

- Family situation.
- Level of emotional maturity.
- Ability to cope with illness and treatment.
- Age.
- State of development.
- Previous experience with illness.
- Personal ego strength.

A comprehensive assessment for childhood depression is the basis for accurate diagnosis and treatment. Evaluation of the child and family situation focuses on the pediatric health history, behaviors observed by the practitioner or reported by others (e.g., parents and teachers), interviews with the child, and judicial use of tests such as the Beck Depression Inventory or the Child Behavior Checklist.[10]

#### Diagnosis

In discussing the diagnosis of childhood depression, experts stress the importance of understanding childhood depression as an entity distinct from depression in adults because developmental issues in childhood are distinctly different from those of adulthood.[11]

A model of childhood affective disorders uses the following explicit criteria:[12]

- Dysphoric mood (children younger than 6 years must also have a sad facial expression).
- At least 4 of the following signs or symptoms present every day for a period of at least 2 weeks:
  - Appetite disturbance.
  - Insomnia or hypersomnia.
  - Psychomotor agitation or retardation.
  - Loss of interest or pleasure in usual activities (children younger than 6 years must also have signs of apathy).
  - Fatigue or loss of energy.
  - Feelings of worthlessness, self-reproach, or excessive, inappropriate guilt.
  - Diminished ability to think or concentrate.
  - Recurrent thoughts of death or suicide.

### Management of Pediatric Depression

Treatment regimens implemented for childhood depression reflect theoretical models, etiology, and manifestations of the disorder.[1] Individual and group psychotherapy are commonly utilized as the primary treatment modality and are directed at helping the child to master his or her difficulties and to enable the child to develop in an optimal manner. Play therapy may be used as a means of exploring a younger child’s view of himself or herself, the disease, and its treatment. The child needs to be helped from the beginning to explore and understand, at a level appropriate for his or her developmental age, the diagnosis of cancer and the treatments involved.[1]

As is the case with depression in adult cancer patients, there are few, if any, revealing trials of antidepressants in children with cancer. One author described rapid clinical response to low doses (<2 mg/kg/d) of imipramine or amitriptyline for eight depressed children with cancer.[13][Level of evidence: III] Another author described the use of benzodiazepines such as lorazepam, diazepam, alprazolam, and clonazepam for the treatment of anxiety disorders. Trials of benzodiazepines are short term. These drugs are tapered slowly when they are discontinued.[14]

#### Pharmacological management

The combined use of tricyclic antidepressants and neuroleptics in the management of three children with severe symptoms of depression and anxiety has been reported. The children studied were in the terminal phases of their disease and were treated with a combination of low-dose amitriptyline and haloperidol. Levels of anxiety and depression were decreased, and this intervention allowed the patients and their families to deal with issues involved in death and dying.[15][Level of evidence: III]

### References

Deuber CM: Depression in the school-aged child: implications for primary care. Nurse Pract 7 (8): 26-30, 68, 1982.7133571 83037740
Kazak AE: Psychological issues in childhood cancer survivors. J Assoc Pediatr Oncol Nurses 6 (1): 15-6, 1989.2921738 89157378
O'Malley JE, Koocher G, Foster D, et al.: Psychiatric sequelae of surviving childhood cancer. Am J Orthopsychiatry 49 (4): 608-16, 1979.495703 80039901
Kaplan SL, Busner J, Weinhold C, et al.: Depressive symptoms in children and adolescents with cancer: a longitudinal study. J Am Acad Child Adolesc Psychiatry 26 (5): 782-7, 1987.3667512 88032788
Fritz GK, Williams JR, Amylon M: After treatment ends: psychosocial sequelae in pediatric cancer survivors. Am J Orthopsychiatry 58 (4): 552-61, 1988.3228162 89148393
Greenberg HS, Kazak AE, Meadows AT: Psychologic functioning in 8- to 16-year-old cancer survivors and their parents. J Pediatr 114 (3): 488-93, 1989.2921697 89157263
Rait DS, Jacobsen PB, Lederberg MS, et al.: Characteristics of psychiatric consultations in a pediatric cancer center. Am J Psychiatry 145 (3): 363-4, 1988.3344854 88148152
Tebbi CK, Bromberg C, Mallon JC: Self-reported depression in adolescent cancer patients. Am J Pediatr Hematol Oncol 10 (3): 185-90, 1988 Fall.3177808 89023825
Kashani J, Hakami N: Depression in children and adolescents with malignancy. Can J Psychiatry 27 (6): 474-7, 1982.6982747 83050478
Archenbach TM, ed.: Manual for the Child Behavior Checklist and Revised Child Behavior Profile. T.M. Achenbach, 1983.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-IV-TR. 4th rev. ed. American Psychiatric Association, 2000.
Malmquist CP: Major depression in childhood: why don't we know more? Am J Orthopsychiatry 53 (2): 262-8, 1983.
Pfefferbaum-Levine B, Kumor K, Cangir A, et al.: Tricyclic antidepressants for children with cancer. Am J Psychiatry 140 (8): 1074-6, 1983.6869596 83253511
Coffey BJ: Review and update: benzodiazepines in childhood and adolescence. Psychiatr Ann 23 (6): 332-9, 1993.
Maisami M, Sohmer BH, Coyle JT: Combined use of tricyclic antidepressants and neuroleptics in the management of terminally ill children: a report on three cases. J Am Acad Child Psychiatry 24 (4): 487-9, 1985.4019979 85262462

## Latest Updates to This Summary (07/25/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Suicide Risk in Cancer Patients

Updated Harmer et al. as reference 8.

Added text about a study that found suicide rates in people with cancer were three times higher than in the general population, and up to ten times higher in people with cancers with poorer prognosis, e.g., pancreatic cancer (cited Kinslow et al. as reference 4).

Added text to state that poorer prognosis, nonlocalized disease, and aggressive or advanced cancer with a survival rate of fewer than 5 years have been found to be closely associated with higher suicide risk early after cancer diagnosis, with an even greater risk in populations with higher baseline risk factors (male, White race, aged 60 years and older).

This section was reformatted.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer-related depression and suicide risk in both the adult and the pediatric populations. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Depression are:

- Marilyn J. Hammer, PhD, DC, RN, FAAN (Dana-Farber Cancer Institute)
- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)
- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Depression. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/feelings/depression-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389407]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).